# Last Days of Life (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about patient care during the last days to last hours of life. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Despite progress in developing treatments that have improved life expectancies for patients with advanced-stage cancer, the American Cancer Society estimates that 618,120 Americans will die of cancer in 2025.[1] People with cancer die under various circumstances. A report of the Dartmouth Atlas Project analyzed Medicare data from 2007 to 2010 for cancer patients older than 65 years who died within 1 year of diagnosis.[2] Across the United States, 25% of patients died in a hospital, with 62% hospitalized at least once in the last month of life. In addition, 29% of patients were admitted to an intensive care unit in the last month of life. Approximately 6% of patients nationwide received chemotherapy in the last month of life. Conversely, about 61% of patients who died used hospice service. However, the average length of stay in hospice was only 9.1 days, and 11% of patients were enrolled in the last 3 days of life. Significant regional variations in the descriptors of end-of-life (EOL) care remain unexplained.

Patient and family preferences may contribute to the observed patterns of care at the EOL. Patient recall of EOL discussions, spiritual care, or early palliative care, however, are associated with less-aggressive EOL treatment and/or increased utilization of hospice.[3-7] In addition, death in a hospital has been associated with poorer quality of life and increased risk of psychiatric illness among bereaved caregivers.[8] Thus, it is important to help patients and their families articulate their goals of care and preferences near the EOL. For more information, see Planning the Transition to End-of-Life Care in Advanced Cancer.

This summary provides clinicians with information about anticipating the EOL; the common symptoms patients experience as life ends, including in the final hours to days; and treatment or care considerations. The decisions commonly made by patients, families, and clinicians are also highlighted, with suggested approaches. The goal of this summary is to provide essential information for high-quality EOL care.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Goodman DC, Morden NE, Chang CH: Trends in Cancer Care Near the End of Life: A Dartmouth Atlas of Health Care Brief. Dartmouth Institute for Health Policy & Clinical Practice, 2013. Available online. (https://data.dartmouthatlas.org/downloads/reports/Cancer_brief_090413.pdf) Last accessed Jan. 24, 2025.
Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Mack JW, Cronin A, Keating NL, et al.: Associations between end-of-life discussion characteristics and care received near death: a prospective cohort study. J Clin Oncol 30 (35): 4387-95, 2012.23150700
Balboni TA, Paulk ME, Balboni MJ, et al.: Provision of spiritual care to patients with advanced cancer: associations with medical care and quality of life near death. J Clin Oncol 28 (3): 445-52, 2010.20008625
Temel JS, Greer JA, Muzikansky A, et al.: Early palliative care for patients with metastatic non-small-cell lung cancer. N Engl J Med 363 (8): 733-42, 2010.20818875
Hui D, Kim SH, Roquemore J, et al.: Impact of timing and setting of palliative care referral on quality of end-of-life care in cancer patients. Cancer 120 (11): 1743-9, 2014.24967463
Wright AA, Keating NL, Balboni TA, et al.: Place of death: correlations with quality of life of patients with cancer and predictors of bereaved caregivers' mental health. J Clin Oncol 28 (29): 4457-64, 2010.20837950

## Anticipating the End of Life

### The Final Days to Weeks of Life

Providing excellent care toward the end of life (EOL) requires an ability to anticipate when to focus mainly on palliation of symptoms and quality of life instead of disease treatment.[1] Prognostic information plays an important role for making treatment decisions and planning for the EOL. However, the available literature suggests that medical providers inaccurately predict how long patients will live and tend to overestimate survival times.[2,3] This appears to hold true even for providers who are experienced in treating patients who are terminally ill. In a multicenter cohort study of 230 hospitalized patients with advanced cancer, palliative care providers correctly predicted time to death for only 41% of patients. Survival time was overestimated in 85% of patients for whom medical providers gave inaccurate predictions, and providers were particularly likely to overestimate survival for Black and Latino patients.[4]

Providers attempting to make prognostic determinations may attend to symptoms that may herald the EOL, or they may observe trends in patients’ functional status. For more information, see the Impending Death section.

For example, one group of investigators [5] retrospectively analyzed nearly 71,000 Palliative Performance Scale (PPS) scores obtained from a cohort of 11,374 adult outpatients with cancer who were assessed by physicians or nurses at the time of clinic visits. The PPS is an 11-point scale describing a patient’s level of ambulation, level of activity, evidence of disease, ability to perform self-care, nutritional intake, and level of consciousness.

The investigators assigned patients to one of four states:

- Stable (PPS score, 70–100).
- Transitional (PPS score, 40–60).
- EOL (PPS score, 10–30).
- Dead.

Of the 4,806 patients who died during the study period, 49% were recorded as being in the transitional state, and 46% were recorded as being in the stable state. For a patient who was in the transitional state, the probability of dying within a month was 24.1%, which was less than that for a patient in the EOL state (73.5%). The results suggest that serial measurement of the PPS may aid patients and clinicians in identifying the approach of the EOL.

In contrast to the data indicating that clinicians are relatively poor independent prognosticators, a study published in 2019 compared the relative accuracies of the PPS, the Palliative Prognostic Index, and the Palliative Prognostic Score with clinicians' predictions of survival for patients with advanced cancer who were admitted to an inpatient palliative care unit. At study enrollment, the investigators calculated the scores from the three prognostication tools for 204 patients and asked the unit’s palliative care attending physician to estimate each patient’s life expectancy (0–14 days, 15–42 days, or over 42 days). Reasons for admission included pain (90.7%), bowel obstruction (48.0%), delirium (36.3%), dyspnea (34.8%), weakness (27.9%), and nausea (23.5%).[6]

The study found that all four prognostic measures had similar levels of accuracy, except for clinician predictions of survival, which were more accurate for 7-day survival. The authors hypothesized that clinician predictions of survival may be comparable or superior to prognostication tools for patients with shorter prognoses (days to weeks of survival) and may become less accurate for patients who live for months or longer.[6] However, clinician predictions of survival may have been unusually accurate in this study because of the evaluators’ subspecialty experience in palliative care and the more predictable environment and patient population of an acute palliative care unit.

### Impending Death

Impending death, or actively dying, refers to the process in which patients who are expected to die within 3 days exhibit a constellation of symptoms.[7] In the final days of life, patients often experience progressive decline in their neurocognitive, cardiovascular, respiratory, gastrointestinal, genitourinary, and muscular function, which is characteristic of the dying process. A number of highly specific clinical signs can be used to help clinicians establish the diagnosis of impending death (i.e., death within days).[8,9]

Impending death is a diagnostic issue rather than a prognostic phenomenon because it is an irreversible physiological process. The ability to diagnose impending death with confidence is of utmost importance to clinicians because it could affect their communication with patients and families and inform complex health care decisions such as:[10,11]

- Hospital discharge.
- Discontinuation of prescription medications.
- Artificial nutrition.
- Use of life support measures.
- Enrollment on clinical care pathways.

Because clinicians often overestimate survival,[2,3] they often hesitate to diagnose impending death without adequate supporting evidence.

One study examined five signs in cancer patients recognized as actively dying. Investigators reported that the median time to death from the onset of death rattle was 23 hours; from the onset of respiration with mandibular movement, 2.5 hours; from the onset of cyanosis in extremities, 1 hour; and from the onset of pulselessness on the radial artery, 2.6 hours.[12]

The Investigating the Process of Dying study systematically examined physical signs in 357 consecutive cancer patients.[9] Among the ten target physical signs, there were three early signs and seven late signs. The early signs had high frequency, occurred more than 1 week before death, and had moderate predictive value that a patient would die in 3 days. Early signs included the following:

- Decreased level of consciousness (Richmond Agitation-Sedation Scale score of –2 or lower).
- Decreased performance status (PPS score ≤20%).
- Dysphagia of liquids.

The late signs occurred mostly in the last 3 days of life, had lower frequency, and were highly specific for impending death in 3 days. Late signs included the following:[9]

- Pulselessness on the radial artery.
- Respiration with mandibular movement.
- Decreased urine output.
- Cheyne-Stokes breathing.
- Death rattle.
- Apnea periods.
- Peripheral cyanosis.

In particular, the high positive likelihood ratios (LRs) of pulselessness on the radial artery (positive LR, 15.6), respiration with mandibular movement (positive LR, 10), decreased urine output (≤200 cc/d) (positive LR, 15.2), Cheyne-Stokes breathing (positive LR, 12.4), and death rattle (positive LR, 9) suggest that these physical signs can be useful for the diagnosis of impending death.[9] Because of low sensitivity, the absence of these signs cannot rule out impending death. A prospective observational study that examined vital signs in the last 7 days of life reported that blood pressure and oxygen saturation decreased as death approached. However, a large proportion of patients had normal vital signs, even in the last 12 hours of life. Moderate changes in vital signs from baseline could not definitively rule in or rule out impending death in 3 days. Therefore, predicting death is difficult, even with careful and repeated observations.[13]

Several other late signs that have been found to be useful for the diagnosis of impending death include the following:[14]

- Nonreactive pupils (positive LR, 16.7; 95% confidence interval [CI], 14.9–18.6).
- Decreased response to verbal stimuli (positive LR, 8.3; 95% CI, 7.7–9).
- Decreased response to visual stimuli (positive LR, 6.7; 95% CI, 6.3–7.1).
- Inability to close eyelids (positive LR, 13.6; 95% CI, 11.7–15.5).
- Drooping of the nasolabial fold (positive LR, 8.3; 95% CI, 7.7–8.9).
- Hyperextension of the neck (positive LR, 7.3; 95% CI, 6.7–8).
- Grunting of vocal cords (positive LR, 11.8; 95% CI, 10.3–13.4).
- Upper gastrointestinal bleeding (positive LR, 10.3; 95% CI, 9.5–11.1).

In conclusion, bedside physical signs may be useful in helping clinicians diagnose impending death with greater confidence, which can, in turn, assist in clinical decision making and communication with families.

### Care During the Final Hours of Life

The recognition of impending death is also an opportunity to encourage family members to notify individuals close to the patient who may want an opportunity to “say goodbye.” In the final hours of life, care should be directed toward the patient and the patient’s loved ones. In addition to continuing a careful and thoughtful approach to any symptoms a patient is experiencing, preparing family and friends for a patient’s death is critical. Preparations include the following:

- Acknowledging the symptoms that are likely to occur.
- Articulating a plan to respond to the symptoms.
- Eliciting fears or concerns of family members.
- Assuring that respectfully allowing life to end is appropriate at this point in the patient’s life.

For more information, see the Symptoms During the Final Months, Weeks, and Days of Life section.

Encouraging family members who desire to “do something” to participate in the care of the patient (e.g., moistening the mouth) may be helpful. In the final days to hours of life, patients often have limited, transitory moments of lucidity. Family members should be prepared for this and educated that this is a natural aspect of the dying process and not necessarily a result of medications being administered for symptoms or a sign that the patient is doing better than predicted. Despite their limited ability to interact, patients may be aware of the presence of others; thus, loved ones can be encouraged to speak to the patient as if he or she can hear them.

Educating family members about certain signs is critical. In the final hours of life, patients often experience a decreased desire to eat or drink, as evidenced by clenched teeth or turning from offered food and fluids. This behavior may be difficult for family members to accept because of the meaning of food in our society and the inference that the patient is “starving.” Family members should be advised that forcing food or fluids can lead to aspiration. Reframing will include teaching the family to provide ice chips or a moistened oral applicator to keep a patient’s mouth and lips moist. Finally, the death rattle is particularly distressing to family members. It is important to assure family members that death rattle is a natural phenomenon and to pay careful attention to repositioning the patient and explain why tracheal suctioning is not warranted.[15] For more information, see the Death Rattle section.

For patients who die in the hospital, clinicians need to be prepared to inquire about the family’s desire for an autopsy, offering reassurance that the body will be treated with respect and that open-casket services are still possible, if desired.

Health care professionals, preferably in consultation with a chaplain or religious leader designated by the patient and/or family, need to explore with families any fears associated with the time of death and any cultural or religious rituals that may be important to them. Such rituals might include placement of the body (e.g., the head of the bed facing Mecca for an Islamic patient) or having only same-sex caregivers or family members wash the body (as practiced in many orthodox religions). When death occurs, expressions of grief by those at the bedside vary greatly, dictated in part by culture and in part by their preparation for the death. Chaplains are to be consulted as early as possible if the family accepts this assistance. Health care providers can offer to assist families in contacting loved ones and making other arrangements, including contacting a funeral home. For more information, see Spirituality in Cancer Care.

### References

Lorenz K, Lynn J, Dy S, et al.: Cancer care quality measures: symptoms and end-of-life care. Evid Rep Technol Assess (Full Rep) (137): 1-77, 2006.17764216
Lamont EB, Christakis NA: Prognostic disclosure to patients with cancer near the end of life. Ann Intern Med 134 (12): 1096-105, 2001.11412049
Hui D, Kilgore K, Nguyen L, et al.: The accuracy of probabilistic versus temporal clinician prediction of survival for patients with advanced cancer: a preliminary report. Oncologist 16 (11): 1642-8, 2011.21976316
Gramling R, Gajary-Coots E, Cimino J, et al.: Palliative Care Clinician Overestimation of Survival in Advanced Cancer: Disparities and Association With End-of-Life Care. J Pain Symptom Manage 57 (2): 233-240, 2019.30391655
Sutradhar R, Seow H, Earle C, et al.: Modeling the longitudinal transitions of performance status in cancer outpatients: time to discuss palliative care. J Pain Symptom Manage 45 (4): 726-34, 2013.22940563
Hui D, Ross J, Park M, et al.: Predicting survival in patients with advanced cancer in the last weeks of life: How accurate are prognostic models compared to clinicians' estimates? Palliat Med 34 (1): 126-133, 2020.31564218
Hui D, Nooruddin Z, Didwaniya N, et al.: Concepts and definitions for "actively dying," "end of life," "terminally ill," "terminal care," and "transition of care": a systematic review. J Pain Symptom Manage 47 (1): 77-89, 2014.23796586
Domeisen Benedetti F, Ostgathe C, Clark J, et al.: International palliative care experts' view on phenomena indicating the last hours and days of life. Support Care Cancer 21 (6): 1509-17, 2013.23242388
Hui D, dos Santos R, Chisholm G, et al.: Clinical signs of impending death in cancer patients. Oncologist 19 (6): 681-7, 2014.24760709
Ellershaw J, Ward C: Care of the dying patient: the last hours or days of life. BMJ 326 (7379): 30-4, 2003.12511460
Hui D, Con A, Christie G, et al.: Goals of care and end-of-life decision making for hospitalized patients at a canadian tertiary care cancer center. J Pain Symptom Manage 38 (6): 871-81, 2009.19811887
Morita T, Ichiki T, Tsunoda J, et al.: A prospective study on the dying process in terminally ill cancer patients. Am J Hosp Palliat Care 15 (4): 217-22, 1998 Jul-Aug.9729972
Bruera S, Chisholm G, Dos Santos R, et al.: Variations in vital signs in the last days of life in patients with advanced cancer. J Pain Symptom Manage 48 (4): 510-7, 2014.24731412
Hui D, Dos Santos R, Chisholm G, et al.: Bedside clinical signs associated with impending death in patients with advanced cancer: preliminary findings of a prospective, longitudinal cohort study. Cancer 121 (6): 960-7, 2015.25676895
Shimizu Y, Miyashita M, Morita T, et al.: Care strategy for death rattle in terminally ill cancer patients and their family members: recommendations from a cross-sectional nationwide survey of bereaved family members' perceptions. J Pain Symptom Manage 48 (1): 2-12, 2014.24161372

## Symptoms During the Final Months, Weeks, and Days of Life

### Overview

The available evidence provides some general description of frequency of symptoms in the final months to weeks of the end of life (EOL). However, when the results of published studies of symptoms experienced by patients with advanced cancer are being interpreted or compared, the following methodological issues need to be considered:[1]

- Variation in the instrument used to assess symptoms and/or severity of symptoms.
- Variation in the timing of symptom assessment and whether the assessments were repeated over time.
- Population studied in terms of specific cancers, or a less specified population of people with cancer.
- Whether patients were recruited in the outpatient or inpatient setting.
- Whether specialized palliative care services were available.

Results of one of the larger and more comprehensive studies of symptoms in ambulatory patients with advanced cancer have been reported.[2] Ambulatory patients with advanced cancer were included in the study if they had completed at least one Edmonton Symptom Assessment System (ESAS) in the 6 months before death. The ESAS is a patient-completed measure of the severity of the following nine symptoms:

- Anxiety.
- Lack of appetite.
- Depression.
- Drowsiness.
- Nausea.
- Pain.
- Shortness of breath.
- Tiredness.
- Well-being.

Analysis of the changes in the mean symptom intensity of 10,752 patients (and involving 56,759 assessments) over time revealed two patterns:[2]

- The mean scores for pain, nausea, anxiety, and depression remained relatively stable over the 6 months before death.
- Shortness of breath, drowsiness, well-being, lack of appetite, and tiredness increased in severity over time, particularly in the month before death.

In terms of symptoms closer to the EOL, a prospective study documented the symptom profile in the last week of life among 203 cancer patients who died in acute palliative care units.[3][Level of evidence: II] The proportion of patients able to communicate decreased from 80% to 39% over the last 7 days of life. ESAS anorexia, drowsiness, fatigue, poor well-being, and dyspnea increased in intensity closer to death. In contrast, ESAS depression decreased over time. Dysphagia of solids and liquids and urinary incontinence were also present in an increasing proportion of patients in the last few days of life. Less common but equally troubling symptoms that may occur in the final hours include death rattle and hemorrhage.

The following sections summarize some of the common symptoms and potential approaches to ameliorating those symptoms, based on available evidence. A final note of caution is warranted. Symptoms often cluster, and the presence of a symptom should prompt consideration of other symptoms to avoid inadvertently worsening other symptoms in the cluster. For example, a systematic review of observational studies concluded that there were four common clusters of symptoms (anxiety-depression, nausea-vomiting, nausea-appetite loss, and fatigue-dyspnea-drowsiness-pain).[4]

### Delirium

Terminal delirium occurs before death in 50% to 90% of patients.[5] Most patients have hypoactive delirium, with a decreased level of consciousness. Agitation, hallucinations, and restlessness may occur in a small proportion of patients with hyperactive and/or mixed delirium. Delirium is associated with shorter survival and complicates symptom assessment, communication, and decision making. Furthermore, it can be extremely distressing to caregivers and health professionals.[6-8] Risk factors associated with terminal delirium include the following:[9]

- Hypoxic encephalopathy.
- Metabolic factors.
- Lack of reversible factors such as psychoactive medications and dehydration.

Safety measures include protecting patients from accidents or self-injury while they are restless or agitated. The use of restraints should be minimized. Reorientation strategies are of little use during the final hours of life. Education and support for families witnessing a loved one’s delirium are warranted.

There are few randomized controlled trials on the management of delirium in patients with terminal or irreversible delirium.[10] Care of the patient with delirium can include stopping unnecessary medications, reversing metabolic abnormalities (if consistent with the goals of care), treating the symptoms of delirium, and providing a safe environment. Agents known to cause delirium include:

- Corticosteroids.
- Chemotherapeutic agents.
- Biological response modifiers.
- Opioids.
- Antidepressants.
- Benzodiazepines.
- Anticholinergic agents.

In a small, open-label, prospective trial of 20 cancer patients who developed delirium while being treated with morphine, rotation to fentanyl reduced delirium and improved pain control in 18 patients.[11][Level of evidence: II]

The onset of effect and non-oral modes of delivery are considered when an agent is being selected to treat delirium at the EOL. Agents that can be used to manage delirium include haloperidol, 1 to 4 mg orally, intravenously (IV), or subcutaneously.[12] The dose is usually repeated every 4 to 6 hours but in severe cases can be administered every hour. Chlorpromazine can be used, but IV administration can lead to severe hypotension; therefore, it should be used cautiously.[13] Other agents that may be effective include olanzapine, 2.5 to 20 mg orally at night (available in an orally disintegrating tablet for patients who cannot swallow);[14][Level of evidence: II] quetiapine;[15] and risperidone (0.5–2 mg).[16] While no randomized clinical trial demonstrates superiority of any agent over haloperidol, small (underpowered) studies suggest that olanzapine may be comparable to haloperidol.

In addition, a small, double-blind, randomized trial at the University of Texas MD Anderson Cancer Center compared the relative sedating effects of scheduled haloperidol, chlorpromazine, and a combination of the two for advanced-cancer patients with agitated delirium.[17] The investigators screened 998 patients from the palliative and supportive care unit and randomly assigned 68 patients who met the inclusion criteria for having agitated delirium refractory to scheduled haloperidol 1 to 8 mg/day to three intervention groups: haloperidol 2 mg every 4 hours, chlorpromazine 25 mg every 4 hours, or haloperidol 1 mg combined with chlorpromazine 12.5 mg every 4 hours. Rescue doses equivalent to the standing dose were allowed every 1 hour as needed and once at protocol initiation, with the goal of producing sedation with a Richmond Agitation-Sedation Scale (RASS) score of 0 to –2. Dose escalations and rescue doses were allowed for persistent symptoms.

Of the 68 randomized patients, 45 patients were treated and monitored until death or discharge. Patients in all three groups demonstrated clinically significant decreases in RASS scores within 30 minutes and remained sedated at 24 hours. No statistically significant difference in sedation levels was observed between the three protocols. However, the chlorpromazine group was less likely to develop breakthrough restlessness requiring rescue doses or baseline dosing increases. The most common adverse event was hypotension, which was seen in 40% of patients in the haloperidol group, 31% of those in the chlorpromazine group, and 21% of those in the combination group.[17] One patient in the combination group discontinued therapy because of akathisia. The study was limited by a small sample size and the lack of a placebo group. Although all three interventions were effective at controlling agitation, it is worth noting that they controlled agitation via significant sedation, which may not be desired by all patients and/or their families.

Although benzodiazepines (such as lorazepam) or antidopaminergic medications could exacerbate delirium, they may be useful for the treatment of hyperactive delirium that is not controlled by other supportive measures. In intractable cases of delirium, palliative sedation may be warranted. A randomized controlled trial compared the effect of lorazepam versus placebo as an adjunctive to haloperidol on the intensity of agitation in 58 patients with delirium in a palliative care unit.[18] Patients were eligible for the study if they had a diagnosis of delirium with a history of agitation (hyperactive delirium subtype). Once enrolled, patients began a regimen of haloperidol 2 mg IV every 4 hours, with 2 mg IV hourly as needed for agitation. The RASS score was monitored every 2 hours until the score was 2 or higher. At this threshold, the patient received lorazepam 3 mg or matching placebo with one additional dose of haloperidol 2 mg. The primary outcome of RASS score reduction was measured 8 hours after administration of the study drug. Patients in the lorazepam group experienced a statistically significant reduction in RASS score (increased sedation) at 8 hours (–4.1 points for lorazepam/haloperidol vs. –2.3 points for placebo/haloperidol; mean difference, –1.9 points [95% confidence interval, –2.8 to –0.9]; P < .001). Lorazepam-treated patients also required significantly lower doses of rescue neuroleptics and, after receiving the study medication, were perceived to be in greater comfort by caregivers and nurses. No differences in mortality were noted between the treatment arms.

Caution should be exercised in the use of this protocol because of the increased risk of significant sedation. The reduction in agitation is directly proportional to increased sedation to the point of patients being “minimally responsive to verbal stimulus” or conversion to hypoactive delirium during the remaining hours of life.[19] Communication with patients and surrogates to determine goal-concordant care in the setting of terminal or hyperactive delirium is imperative to ensure that sedation is an intended outcome of this protocol in which symptom reduction is the primary intention of the intervention. Intensive evaluation of RASS scores may be challenging for the bedside nurse. Finally, this study examined a single dose of lorazepam 3 mg; repeat doses were not studied and may accumulate in patients with liver and/or renal dysfunction.[18]

In dying patients, a poorly understood phenomenon that appears to be distinct from delirium is the experience of auditory and/or visual hallucinations that include loved ones who have already died (also known as EOL experience). Although patients may sometimes find these hallucinations comforting, fear of being labeled confused may prevent patients from sharing their experiences with health care professionals.[20] Family members at the bedside may find these hallucinations disconcerting and will require support and reassurance. Consultation with the patient’s or family’s religious or spiritual advisor or the hospital chaplain is often beneficial.

### Fatigue

Fatigue is one of the most common symptoms at the EOL and often increases in prevalence and intensity as patients approach the final days of life.[21] Fatigue at the EOL is multidimensional, and its underlying pathophysiology is poorly understood.[22] It may be associated with drowsiness, weakness, and sleep disturbance. Scores on the Palliative Performance Scale also decrease rapidly during the last 7 days of life.[23] No clinical trials have been conducted in patients with only days of life expectancy. Methylphenidate may be useful in selected patients with weeks of life expectancy.[24] For more information, see Fatigue.

### Dyspnea

Treatment options for dyspnea, defined as difficult, painful breathing or shortness of breath, include opioids, nasal cannula oxygen, fans, raising the head of the bed, noninvasive ventilation, and adjunctive agents.

#### Opioids

Opioids are often considered the preferred first-line treatment option for dyspnea. However, the evidence supporting this standard is controversial, according to a 2016 Cochrane review that found only low-quality evidence to support the use of opioids to treat breathlessness. The review’s authors suggest that larger, more rigorous studies are needed to conclusively determine whether opioids are effective for treating dyspnea, and whether they have an impact on quality of life for patients suffering from breathlessness.[25]

#### Nasal cannula oxygen

The routine use of nasal cannula oxygen for patients without documented hypoxemia is not supported by the available data. One group of investigators reported a double-blind randomized controlled trial comparing the severity of morning and evening breathlessness as reported by patients who received either supplemental oxygen or room air via nasal cannula.[26] No differences in the primary outcome of symptomatic relief for refractory dyspnea were found in the 239 subjects enrolled in the trial. There were no significant differences in secondary outcomes such as extreme drowsiness or nasal irritation. Potential criticisms of the study include the trial period being only 7 days and a single numerical scale perhaps inadequately reflecting the palliative benefit of oxygen.

#### Fans

A small pilot trial randomly assigned 30 Chinese patients with advanced cancer with unresolved breathlessness to either usual care or fan therapy.[27] The outcome measures included a self-report measure of breathlessness, respiratory rate, and measured oxygen saturation. The measurements were performed before and after fan therapy for the intervention group. There was a significant improvement in the self-reported scores of the patients in the fan group but not in the scores of controls. There were no changes in respiratory rates or oxygen saturations in either group.

#### Raising the head of the bed

Because dyspnea may be related to position-dependent changes in ventilation and perfusion, it may be worthwhile to try to determine whether a change in the patient’s positioning in bed alleviates air hunger.

#### Noninvasive ventilation

A randomized trial compared noninvasive ventilation (with tight-fitting masks and positive pressure) with supplemental oxygen in a group of advanced-cancer patients in respiratory failure who had chosen to forgo all life support and were receiving palliative care.[28] Patients had to have significant oxygen needs as measured by the ratio of the inhaled oxygen to the measured partial pressure of oxygen in the blood. Two hundred patients were randomly assigned to treatment. Patients in the noninvasive-ventilation group reported more-rapid improvement in dyspnea and used less palliative morphine in the 48 hours after enrollment. Eleven patients in the noninvasive-ventilation group withdrew because of mask discomfort.

It should be noted that all patients were given subcutaneous morphine titrated to relief of dyspnea. Whether patients with less severe respiratory status would benefit is unknown. The generalizability of the intervention is limited by the availability of equipment for noninvasive ventilation. In addition, while noninvasive ventilation is less intrusive than endotracheal intubation, a clear understanding of the goals of the intervention and whether it will be electively discontinued should be established.

#### Adjunctive agents

Bronchodilators, corticosteroids, and antibiotics may be considered in select situations, provided the use of these agents are consistent with the patient’s goals of care. Bronchodilators may help patients with evidence of bronchoconstriction on clinical examination. Their use carries a small but definite risk of anxiousness and/or tachycardia. Corticosteroids may also be of benefit but carry a risk of anxiety, insomnia, and hyperglycemia. The treatment of potential respiratory infections with antibiotics likewise calls for a consideration of side effects and risks.

### Pain

The prevalence of pain is between 30% and 75% in the last days of life.[21,29] The assessment of pain may be complicated by delirium. Many patients fear uncontrolled pain during the final days of life, but experience suggests that most patients can obtain pain relief and that very high doses of opioids are rarely indicated.[30] Indeed, the average intensity of pain often decreases as patients approach the final days.[2]

Some patients, family members, and health care professionals express concern that opioid use may hasten death. Several studies refute the fear of hastened death associated with opioid use. In several surveys of high-dose opioid use in hospice and palliative care settings, no relationship between opioid dose and survival was found.[30-33]

The principles of pain management remain similar to those for patients earlier in the disease trajectory, with opioids being the standard option. Because consciousness may diminish during this time and swallowing becomes difficult, practitioners need to anticipate alternatives to the oral route. In one study, as patients approached death, the use of intermittent subcutaneous injections and IV or subcutaneous infusions increased.[34] Both IV and subcutaneous routes are effective in delivering opioids and other agents in the inpatient or home setting. For patients who do not have a preexisting access port or catheter, intermittent or continuous subcutaneous administration provides a painless and effective route of delivery.[35] For a more complete review of parenteral administration of opioids and opioid rotation, see Cancer Pain.

### Cough

Cough is a relatively common symptom in patients with advanced cancer near the EOL. In one small study, 33% of patients with advanced cancer who were enrolled in hospice and who completed the Memorial Symptom Assessment Scale reported cough as a troubling symptom.[36] This compares to a prevalence of lack of energy (68%), pain (63%), and dyspnea (60%). The treatment of troublesome coughing in patients in the final weeks to days of life is largely empiric, although diagnostic imaging or evaluation may occasionally be of value. In another study of patients with advanced cancer admitted to acute palliative care units, the prevalence of cough ranged from 10% to 30% in the last week of life.[3] However, simple investigations such as reviewing medications or eliciting a history of symptoms compatible with gastroesophageal reflux disease are warranted because some drugs (e.g., angiotensin-converting enzyme inhibitors) cause cough, or a prescription for antacids may provide relief. In addition, patients may have comorbid conditions that contribute to coughing. For more information about common causes of cough for which evaluation and targeted intervention may be indicated, see Cardiopulmonary Syndromes.

The cough reflex protects the lungs from noxious materials and clears excess secretions. The reflex is initiated by stimulation of peripheral cough receptors, which are transmitted to the brainstem by the vagus nerve. Activation of the central “cough center” mechanism causes a deep inspiration, followed by expiration against a closed glottis; then the glottis opens, allowing expulsion of the air.[37] The empiric approach to cough may be organized as follows:

- Expectorants increase bronchial fluids and reduce the viscosity of secretions, which improves the likelihood of successfully clearing the material. Guaifenesin is commonly available in over-the-counter cold or cough remedies. A reasonable dose is 200 to 400 mg every 4 to 6 hours.
- Antimuscarinics decrease oral secretions, which may initiate a cough reflex if the patient cannot swallow adequately. For more information, see the Death Rattle section.
- Centrally acting antitussives suppress the putative cough center in the brain stem. All opioids have antitussive properties. Dextromethorphan is available in over-the-counter cough suppressants. Codeine is commonly prescribed initially; if it is not effective, then patients receive a more potent opioid such as morphine. However, evidence suggests that morphine [38] or hydrocodone [39] is preferable.

As discussed in the Dyspnea section, the use of bronchodilators, corticosteroids, or inhaled steroids is limited to specific indications, given the potential risks and the lack of evidence of benefit outside of specific indications.

### Constipation

The prevalence of constipation ranges from 30% to 50% in the last days of life.[3,29] The use of laxatives for patients who are imminently dying may provide limited benefit. Such patients often have dysphagia and very poor oral intake. Treatment of constipation in patients with only days of expected survival is guided by symptoms. If indicated, laxatives may be given rectally (e.g., bisacodyl or enemas).

### Dysphagia

Functional dysphagia and structural dysphagia occur in a large proportion of cancer patients in the last days of life. Specifically, patients often have trouble swallowing both liquids and solids, which is often associated with anorexia and cachexia. In one study of cancer patients, the oral route of opioid administration was continued in 62% of patients at 4 weeks before death, in 43% at 1 week before death, and in 20% at 24 hours before death.[34] The clinical implication is that essential medications may need to be administered through other routes, such as IV, subcutaneous, rectal, and transdermal. Nonessential medications are discontinued.

Artificial nutrition is of no known benefit at the EOL and may increase the risk of aspiration and/or infections. Instead of tube-feeding or ordering nothing by mouth, providing a small amount of food for enjoyment may be reasonable if a patient expresses a desire to eat. For more information, see the sections on Artificial Hydration and Artificial Nutrition.

### Death Rattle

Death rattle, also referred to as excessive secretions, occurs when saliva and other fluids accumulate in the oropharynx and upper airways in a patient who is too weak to clear the throat. Rattle does not appear to be distressing for the patient; however, family members may perceive death rattle as indicating the presence of untreated dyspnea. Thus, the family will benefit from learning about the nature of this symptom and that death rattle is not associated with dyspnea.

Rattle is an indicator of impending death, with an incidence of approximately 50% to 60% in the last days of life and a median onset of 16 to 57 hours before death.[23,40,41] Two types of rattle have been identified:[42,43]

- Real death rattle, or type 1, which is probably caused by salivary secretions.
- Pseudo death rattle, or type 2, which is probably caused by deeper bronchial secretions due to infection, tumor, fluid retention, or aspiration.

In one retrospective chart review, rattle was relieved in more than 90% of patients with salivary secretions, while patients with secretions of pulmonary origin were much less likely to respond to treatment.[43]

The results of clinical trials examining various pharmacological agents for the treatment of death rattle have so far been negative.[44] A small, double-blind, randomized, controlled trial that compared scopolamine with normal saline found no statistical significance.[45] Another randomized study revealed no difference between atropine and placebo.[46] Results of other randomized controlled studies that examined octreotide,[47] glycopyrrolate,[48] and hyoscine butylbromide [49] versus scopolamine were also negative.

Despite the lack of clear evidence, pharmacological therapies are used frequently in clinical practice.[50,51] Among the options described above, glycopyrrolate may be preferred because it is less likely to penetrate the central nervous system and has fewer adverse effects than other antimuscarinic agents, which can worsen delirium. Glycopyrrolate is available parenterally and in oral tablet form. Doses typically range from 1 to 2 mg orally or 0.1 to 0.2 mg IV or subcutaneously every 4 hours, or by continuous IV infusion at a rate of 0.4 to 1.2 mg per day. Repositioning is often helpful. Suctioning of excessive secretions may be considered for some patients, although this may elicit the gag reflex and be counterproductive.

Given the limited efficacy of pharmacological interventions for death rattle, clinicians should consider factors that can help prevent it. In one secondary analysis of an observational study of patients who were dying of abdominal malignancies, audible death rattle was correlated with the volume of IV hydration administered. Patients who received more than 500 mL of IV fluid in the week before death had a significantly higher risk of developing death rattle in the 48 hours before death than patients who received less than 500 mL of IV fluid. Along with patient wishes and concomitant symptoms, clinicians should consider limiting IV hydration in the final days before death.[52][Level of evidence: II] For more information, see the Artificial Hydration section.

### Opioid-Induced Neurotoxicity and Myoclonus

Health care professionals need to monitor patients for opioid-induced neurotoxicity, which can cause symptoms such as myoclonus, hallucinations, hyperalgesia, seizures, and confusion, and which may mimic terminal delirium. One retrospective study examined 390 patients with advanced cancer at the University of Texas MD Anderson Cancer Center who had been taking opioids for 24 hours or longer and who received palliative care consultations. The study suggested that 15% of these patients developed at least one symptom of opioid-induced neurotoxicity, the most common of which was delirium (47%).[53] When opioid-induced neurotoxicity is suspected, opioid rotation may be considered.[11]

Myoclonus is defined as sudden and involuntary movements caused by focal or generalized muscle contractions. The duration of contractions is brief and may be described as shocklike. There are many potential causes of myoclonus, most of which probably stem from the metabolic derangements anticipated as life ends. Medications, particularly opioids, are another potential etiology. The reported prevalence of opioid-induced myoclonus ranges greatly, from 2.7% to 87%.[54]

When opioids are implicated in the development of myoclonus, rotation to a different opioid is the primary treatment. In patients with rapidly impending death, the health care provider may choose to treat the myoclonus rather than make changes in opioids during the final hours. Benzodiazepines, including clonazepam, diazepam, and midazolam, have been recommended.[54-56] The anticonvulsant gabapentin has been reported to be effective in relieving opioid-induced myoclonus,[57] although other reports implicate gabapentin as a cause of myoclonus.[58,59][Level of evidence: III] In one small randomized study, hydration was found to reduce myoclonus.[60][Level of evidence: I]

### Fever

There are no reliable data on the frequency of fever. A prospective study of 232 adults with terminal cancer admitted to a hospice and palliative care unit in Taiwan indicated that fever was uncommon and of moderate severity (mean score, 0.37 on a scale of 1–3).[61] There was no increase in fever in the 2 days immediately preceding death. In addition to considering diagnostic evaluation and therapeutic intervention, the clinician needs to carefully assess whether the patient is distressed or negatively affected by the fever.

There are no data showing that fever materially affects the quality of the experience of the dying person. While infection may cause a fever, other etiologies such as medications or the underlying cancer are to be strongly considered. While the main objective in the decision to use antimicrobials is to treat clinically suspected infections in patients who are receiving palliative or hospice care,[62-64][Level of evidence: II] subsequent information suggests that the risks of using empiric antibiotics do not appear justified by the possible benefits for people near death.[65]

### Catastrophic Hemorrhage

Hemorrhage is an uncommon (6%–14%) yet extremely distressing event, especially when it is sudden and catastrophic.[66] Patients with bone marrow failure or liver failure are susceptible to bleeding caused by lack of adequate platelets or coagulation factors; patients with advanced cancer, especially head and neck cancers, experience bleeding caused by fungating wounds or damage to vascular structures from tumor growth, surgery, or radiation. Patients may also experience gastrointestinal bleeding from ulcers, progressive tumor growth, or chemotherapy-induced mucositis.

The management of catastrophic bleeding may include identification of patients who are at risk of catastrophic bleeding and careful communication about risk and potential management strategies. However, two qualitative interview studies of clinicians whose patients experienced catastrophic bleeding at the EOL suggest that it is often impossible to anticipate bleeding and that a proactive approach may cause patients and families undue distress.[67,68] Furthermore, the lack of evidence that catastrophic bleeding can be prevented with medical interventions such as transfusions needs to be taken into account in discussions with patients about the risks of bleeding.

Another strategy is to prepare to administer anxiolytics or sedatives to patients who experience catastrophic bleeding, between the start of the bleeding and death. However, there is little evidence supporting the effectiveness of this approach;[66,68] the experience of clinicians is often that patients become unconscious before the drugs can be administered, and the focus on medications may distract from providing patients and families with reassurance that suffering is unlikely. Nevertheless, the availability of benzodiazepines for rapid sedation of patients who experience catastrophic bleeding may provide some reassurance for family caregivers. Additionally, having dark towels available to camouflage the blood can reduce distress experienced by loved ones who are present at the time of hemorrhage.

After the death of a patient from a catastrophic hemorrhage, family members and team members are encouraged to verbalize their emotions regarding the experience, and their questions need to be answered.

### Palliative Sedation to Treat EOL Symptoms

In rare situations, EOL symptoms may be refractory to all of the treatments described above. In such cases, palliative sedation may be indicated, using benzodiazepines, barbiturates, or neuroleptics. Refractory dyspnea is the second most common indication for palliative sedation, after agitated delirium.[69] For more information, see the Palliative Sedation section.

### References

Moens K, Higginson IJ, Harding R, et al.: Are there differences in the prevalence of palliative care-related problems in people living with advanced cancer and eight non-cancer conditions? A systematic review. J Pain Symptom Manage 48 (4): 660-77, 2014.24801658
Seow H, Barbera L, Sutradhar R, et al.: Trajectory of performance status and symptom scores for patients with cancer during the last six months of life. J Clin Oncol 29 (9): 1151-8, 2011.21300920
Hui D, dos Santos R, Chisholm GB, et al.: Symptom Expression in the Last Seven Days of Life Among Cancer Patients Admitted to Acute Palliative Care Units. J Pain Symptom Manage 50 (4): 488-94, 2015.25242021
Dong ST, Butow PN, Costa DS, et al.: Symptom clusters in patients with advanced cancer: a systematic review of observational studies. J Pain Symptom Manage 48 (3): 411-50, 2014.24703941
Solano JP, Gomes B, Higginson IJ: A comparison of symptom prevalence in far advanced cancer, AIDS, heart disease, chronic obstructive pulmonary disease and renal disease. J Pain Symptom Manage 31 (1): 58-69, 2006.16442483
Morita T, Tsunoda J, Inoue S, et al.: Communication Capacity Scale and Agitation Distress Scale to measure the severity of delirium in terminally ill cancer patients: a validation study. Palliat Med 15 (3): 197-206, 2001.11407191
Breitbart W, Gibson C, Tremblay A: The delirium experience: delirium recall and delirium-related distress in hospitalized patients with cancer, their spouses/caregivers, and their nurses. Psychosomatics 43 (3): 183-94, 2002 May-Jun.12075033 22070549
Bruera E, Bush SH, Willey J, et al.: Impact of delirium and recall on the level of distress in patients with advanced cancer and their family caregivers. Cancer 115 (9): 2004-12, 2009.19241420
Lawlor PG, Gagnon B, Mancini IL, et al.: Occurrence, causes, and outcome of delirium in patients with advanced cancer: a prospective study. Arch Intern Med 160 (6): 786-94, 2000.10737278 20199539
Candy B, Jackson KC, Jones L, et al.: Drug therapy for delirium in terminally ill adult patients. Cochrane Database Syst Rev 11: CD004770, 2012.23152226
Morita T, Takigawa C, Onishi H, et al.: Opioid rotation from morphine to fentanyl in delirious cancer patients: an open-label trial. J Pain Symptom Manage 30 (1): 96-103, 2005.16043013
Centeno C, Sanz A, Bruera E: Delirium in advanced cancer patients. Palliat Med 18 (3): 184-94, 2004.15198131
Cowan JD, Palmer TW: Practical guide to palliative sedation. Curr Oncol Rep 4 (3): 242-9, 2002.11937015
Breitbart W, Tremblay A, Gibson C: An open trial of olanzapine for the treatment of delirium in hospitalized cancer patients. Psychosomatics 43 (3): 175-82, 2002 May-Jun.12075032 22070548
Skrobik YK, Bergeron N, Dumont M, et al.: Olanzapine vs haloperidol: treating delirium in a critical care setting. Intensive Care Med 30 (3): 444-9, 2004.14685663
Han CS, Kim YK: A double-blind trial of risperidone and haloperidol for the treatment of delirium. Psychosomatics 45 (4): 297-301, 2004 Jul-Aug.15232043
Hui D, De La Rosa A, Wilson A, et al.: Neuroleptic strategies for terminal agitation in patients with cancer and delirium at an acute palliative care unit: a single-centre, double-blind, parallel-group, randomised trial. Lancet Oncol 21 (7): 989-998, 2020.32479786
Hui D, Frisbee-Hume S, Wilson A, et al.: Effect of Lorazepam With Haloperidol vs Haloperidol Alone on Agitated Delirium in Patients With Advanced Cancer Receiving Palliative Care: A Randomized Clinical Trial. JAMA 318 (11): 1047-1056, 2017.28975307
Pandharipande PP, Ely EW: Humanizing the Treatment of Hyperactive Delirium in the Last Days of Life. JAMA 318 (11): 1014-1015, 2017.28975287
Callanan M, Kelley P: Final Gifts: Understanding the Special Awareness, Needs, and Communications of the Dying. Poseidon Press, 1992.
Toscani F, Di Giulio P, Brunelli C, et al.: How people die in hospital general wards: a descriptive study. J Pain Symptom Manage 30 (1): 33-40, 2005.16043005
Yennurajalingam S, Bruera E: Palliative management of fatigue at the close of life: "it feels like my body is just worn out". JAMA 297 (3): 295-304, 2007.17227981
Hui D, dos Santos R, Chisholm G, et al.: Clinical signs of impending death in cancer patients. Oncologist 19 (6): 681-7, 2014.24760709
Minton O, Richardson A, Sharpe M, et al.: Drug therapy for the management of cancer-related fatigue. Cochrane Database Syst Rev 7: CD006704, 2010.20614448
Barnes H, McDonald J, Smallwood N, et al.: Opioids for the palliation of refractory breathlessness in adults with advanced disease and terminal illness. Cochrane Database Syst Rev 3: CD011008, 2016.27030166
Abernethy AP, McDonald CF, Frith PA, et al.: Effect of palliative oxygen versus room air in relief of breathlessness in patients with refractory dyspnoea: a double-blind, randomised controlled trial. Lancet 376 (9743): 784-93, 2010.20816546
Wong SL, Leong SM, Chan CM, et al.: The Effect of Using an Electric Fan on Dyspnea in Chinese Patients With Terminal Cancer. Am J Hosp Palliat Care 34 (1): 42-46, 2017.26518352
Nava S, Ferrer M, Esquinas A, et al.: Palliative use of non-invasive ventilation in end-of-life patients with solid tumours: a randomised feasibility trial. Lancet Oncol 14 (3): 219-27, 2013.23406914
Conill C, Verger E, Henríquez I, et al.: Symptom prevalence in the last week of life. J Pain Symptom Manage 14 (6): 328-31, 1997.9409097
Thorns A, Sykes N: Opioid use in last week of life and implications for end-of-life decision-making. Lancet 356 (9227): 398-9, 2000.10972375
Bercovitch M, Waller A, Adunsky A: High dose morphine use in the hospice setting. A database survey of patient characteristics and effect on life expectancy. Cancer 86 (5): 871-7, 1999.10463988
Sykes N, Thorns A: The use of opioids and sedatives at the end of life. Lancet Oncol 4 (5): 312-8, 2003.12732169
Bercovitch M, Adunsky A: Patterns of high-dose morphine use in a home-care hospice service: should we be afraid of it? Cancer 101 (6): 1473-7, 2004.15368335
Coyle N, Adelhardt J, Foley KM, et al.: Character of terminal illness in the advanced cancer patient: pain and other symptoms during the last four weeks of life. J Pain Symptom Manage 5 (2): 83-93, 1990.2348092
Anderson SL, Shreve ST: Continuous subcutaneous infusion of opiates at end-of-life. Ann Pharmacother 38 (6): 1015-23, 2004.15122000
Schonwetter RS, Roscoe LA, Nwosu M, et al.: Quality of life and symptom control in hospice patients with cancer receiving chemotherapy. J Palliat Med 9 (3): 638-45, 2006.16752969
Homsi J, Walsh D, Nelson KA: Important drugs for cough in advanced cancer. Support Care Cancer 9 (8): 565-74, 2001.11762966
Wee B, Browning J, Adams A, et al.: Management of chronic cough in patients receiving palliative care: review of evidence and recommendations by a task group of the Association for Palliative Medicine of Great Britain and Ireland. Palliat Med 26 (6): 780-7, 2012.21993808
Homsi J, Walsh D, Nelson KA, et al.: A phase II study of hydrocodone for cough in advanced cancer. Am J Hosp Palliat Care 19 (1): 49-56, 2002 Jan-Feb.12171425
Morita T, Ichiki T, Tsunoda J, et al.: A prospective study on the dying process in terminally ill cancer patients. Am J Hosp Palliat Care 15 (4): 217-22, 1998 Jul-Aug.9729972
Kåss RM, Ellershaw J: Respiratory tract secretions in the dying patient: a retrospective study. J Pain Symptom Manage 26 (4): 897-902, 2003.14527758
Bennett MI: Death rattle: an audit of hyoscine (scopolamine) use and review of management. J Pain Symptom Manage 12 (4): 229-33, 1996.8898506
Wildiers H, Menten J: Death rattle: prevalence, prevention and treatment. J Pain Symptom Manage 23 (4): 310-7, 2002.11997200
Lokker ME, van Zuylen L, van der Rijt CC, et al.: Prevalence, impact, and treatment of death rattle: a systematic review. J Pain Symptom Manage 47 (1): 105-22, 2014.23790419
Likar R, Molnar M, Rupacher E, et al.: A clinical study examining the efficacy of scopolamin-hydrobromide in patients with death rattle (a randomized, double-blind, placebo-controlled study). Z Palliativmed 3 (1): 15-9, 2002.
Heisler M, Hamilton G, Abbott A, et al.: Randomized double-blind trial of sublingual atropine vs. placebo for the management of death rattle. J Pain Symptom Manage 45 (1): 14-22, 2013.22795904
Clark K, Currow DC, Agar M, et al.: A pilot phase II randomized, cross-over, double-blinded, controlled efficacy study of octreotide versus hyoscine hydrobromide for control of noisy breathing at the end-of-life. J Pain Palliat Care Pharmacother 22 (2): 131-8, 2008.19042837
Likar R, Rupacher E, Kager H, et al.: [Efficacy of glycopyrronium bromide and scopolamine hydrobromide in patients with death rattle: a randomized controlled study]. Wien Klin Wochenschr 120 (21-22): 679-83, 2008.19116709
Wildiers H, Dhaenekint C, Demeulenaere P, et al.: Atropine, hyoscine butylbromide, or scopolamine are equally effective for the treatment of death rattle in terminal care. J Pain Symptom Manage 38 (1): 124-33, 2009.19361952
Wee B, Hillier R: Interventions for noisy breathing in patients near to death. Cochrane Database Syst Rev (1): CD005177, 2008.18254072
Bennett M, Lucas V, Brennan M, et al.: Using anti-muscarinic drugs in the management of death rattle: evidence-based guidelines for palliative care. Palliat Med 16 (5): 369-74, 2002.12380654
Yokomichi N, Morita T, Yamaguchi T: Hydration Volume Is Associated with Development of Death Rattle in Patients with Abdominal Cancer. J Palliat Med 25 (1): 130-134, 2022.34665043
Lim KH, Nguyen NN, Qian Y, et al.: Frequency, Outcomes, and Associated Factors for Opioid-Induced Neurotoxicity in Patients with Advanced Cancer Receiving Opioids in Inpatient Palliative Care. J Palliat Med 21 (12): 1698-1704, 2018.30260731
Mercadante S: Pathophysiology and treatment of opioid-related myoclonus in cancer patients. Pain 74 (1): 5-9, 1998.9514554 98173490
Eisele JH, Grigsby EJ, Dea G: Clonazepam treatment of myoclonic contractions associated with high-dose opioids: case report. Pain 49 (2): 231-2, 1992.1376887
Cherny N, Ripamonti C, Pereira J, et al.: Strategies to manage the adverse effects of oral morphine: an evidence-based report. J Clin Oncol 19 (9): 2542-54, 2001.11331334 21229784
Mercadante S, Villari P, Fulfaro F: Gabapentin for opiod-related myoclonus in cancer patients. Support Care Cancer 9 (3): 205-6, 2001.11401105
Scullin P, Sheahan P, Sheila K: Myoclonic jerks associated with gabapentin. Palliat Med 17 (8): 717-8, 2003.14694925
Zhang C, Glenn DG, Bell WL, et al.: Gabapentin-induced myoclonus in end-stage renal disease. Epilepsia 46 (1): 156-8, 2005.15660783
Bruera E, Sala R, Rico MA, et al.: Effects of parenteral hydration in terminally ill cancer patients: a preliminary study. J Clin Oncol 23 (10): 2366-71, 2005.15800328
Chiu TY, Hu WY, Chen CY: Prevalence and severity of symptoms in terminal cancer patients: a study in Taiwan. Support Care Cancer 8 (4): 311-3, 2000.10923772
White PH, Kuhlenschmidt HL, Vancura BG, et al.: Antimicrobial use in patients with advanced cancer receiving hospice care. J Pain Symptom Manage 25 (5): 438-43, 2003.12727041
Clayton J, Fardell B, Hutton-Potts J, et al.: Parenteral antibiotics in a palliative care unit: prospective analysis of current practice. Palliat Med 17 (1): 44-8, 2003.12597465
Reinbolt RE, Shenk AM, White PH, et al.: Symptomatic treatment of infections in patients with advanced cancer receiving hospice care. J Pain Symptom Manage 30 (2): 175-82, 2005.16125033
Nakagawa S, Toya Y, Okamoto Y, et al.: Can anti-infective drugs improve the infection-related symptoms of patients with cancer during the terminal stages of their lives? J Palliat Med 13 (5): 535-40, 2010.20201665
Harris DG, Noble SI: Management of terminal hemorrhage in patients with advanced cancer: a systematic literature review. J Pain Symptom Manage 38 (6): 913-27, 2009.19833478
McGrath P, Leahy M: Catastrophic bleeds during end-of-life care in haematology: controversies from Australian research. Support Care Cancer 17 (5): 527-37, 2009.18810505
Harris DG, Finlay IG, Flowers S, et al.: The use of crisis medication in the management of terminal haemorrhage due to incurable cancer: a qualitative study. Palliat Med 25 (7): 691-700, 2011.21490117
Maltoni M, Scarpi E, Rosati M, et al.: Palliative sedation in end-of-life care and survival: a systematic review. J Clin Oncol 30 (12): 1378-83, 2012.22412129

## Care Decisions in the Final Weeks, Days, and Hours of Life

### The Decision to Discontinue Disease-Directed Therapies

#### Chemotherapy

A significant proportion (approximately 30%) of patients with advanced cancer continue to receive chemotherapy toward the end of life (EOL), including a small number (2%–5%) who receive their last dose of chemotherapy within 14 days of death.[1-4] These numbers may be even higher in certain demographic populations. One small study of African American patients with lung cancer showed that 27% received chemotherapy within the last 30 days of life, and 17.6% did so within the last 14 days.[5][Level of evidence: III] Chemotherapy administered until the EOL is associated with significant adverse effects, resulting in prolonged hospitalization or increased likelihood of dying in an intensive care unit (ICU).[6,7] Thus, the lack of definite or meaningful improvement in survival leads many clinicians to advise patients to discontinue chemotherapy on the basis of an increasingly unfavorable ratio of benefit to risk.

Ultimately, the decision to initiate, continue, or forgo chemotherapy should be made collaboratively and is ideally consistent with the expected risks and benefits of treatment within the context of the patient's goals of care. However, the following reasons independent of the risks and benefits may lead a patient to prefer chemotherapy and are potentially worth exploring:

- Patients with cancer express a willingness to endure more complications of treatment for less benefit than do people without cancer.[8]
- Patients report that receiving chemotherapy facilitates living in the present, perhaps by shifting their attention away from their approaching death. However, patients want their health care providers to inquire about them personally and ask how they are doing.[9]
- Patients and physicians may mutually avoid discussions of options other than chemotherapy because it feels contradictory to the focus on providing treatment.[10]

#### Targeted therapy

The era of personalized medicine has altered this risk/benefit ratio for certain patients. Genomic tumor testing is indicated for multiple tumor types. Finding actionable mutations for targeted therapy is vital for many patients with metastatic cancers.

A 2021 study showed that patients with non-small cell lung cancer (NSCLC) who had EGFR, ALK, or ROS1 mutations and received targeted therapy had better quality-of-life and symptom scores over time, compared with patients without targetable mutations.[11][Level of evidence: III] The study also indicated that the patients who received targeted therapy were more likely to receive cancer-directed therapy in the last 2 weeks of life and to die in the hospital. These patients were also more likely to report that they “rarely or never” discussed their prognosis with their oncologist.[11][Level of evidence: III] As the authors noted, these findings raise concerns that patients receiving targeted therapy may have poorer prognostic awareness and therefore fewer opportunities to prepare for the EOL.

#### Immunotherapy

Immune checkpoint inhibitors have revolutionized the standard of care for multiple cancers. These drugs are increasingly used in older patients and those with poorer performance status for whom traditional chemotherapy may no longer be appropriate, though they may still be associated with unwanted side effects. Predictive factors for whether any given patient will have a significant response to these newer agents are often unclear, making prognostication challenging.[12,13] This uncertainty may lead to questions about when systemic treatment should be stopped and when supportive care only and/or hospice care should begin.

Data on immune checkpoint inhibitor use at the EOL are limited. However, three single-institution, retrospective studies showed that immunotherapy use in the last 30 days of life was associated with lower rates of hospice enrollment, a higher risk of dying in the hospital, greater risk of financial toxicity, and minimal clinical benefits.[12,14,15] A 2023 retrospective observational study involved 57,791 patients from 150 different practices represented in the nationwide database of Flatiron Health deidentified electronic health records. The study showed that White patients were more likely than Black patients to receive immunotherapy in the last month of life (30-day adjusted odds ratio [OR] for Black vs. White patients, 0.86 [95% confidence interval (CI), 0.75–0.98] and 14-day adjusted OR, 0.86 [95% CI, 0.75–0.99]). Additionally, patients with commercial insurance were more likely to receive immunotherapy at EOL than patients with public insurance (30-day adjusted OR, 0.72 [95% CI, 0.57–0.90] and 14-day adjusted OR, 0.68 [95% CI, 0.48–0.96]). The authors also observed a nonsignificant association between treatment in community settings, as opposed to academic centers, and risk of receiving systemic treatments (either immunotherapy or chemotherapy) within 30 days of EOL. Because of these constellation of findings, the authors hypothesized that payment incentives, reimbursement models, and structural inequities may be at play in EOL care.[16]

### The Decision to Enroll in Hospice

Patients with advanced cancer who receive hospice care appear to experience better psychological adjustment, fewer burdensome symptoms, increased satisfaction, improved communication, and better deaths without hastening death.[17-20] The rate of hospice enrollment for people with cancer has increased in recent years. However, this increase is tempered by a reduction in the average length of hospice stay. Because longer hospice stays are associated with caregivers’ perceptions of improved quality of care and increased satisfaction with care, this finding is especially concerning.[21,22] For more information about hospice, including referral, disparities, barriers to utilization, and financial aspects, see Hospice.

### Choosing the Desired Place of Death

#### Adult populations

Many patients with advanced-stage cancer express a desire to die at home,[23] but many will die in a hospital or other facility. Patients who die at home appear to have a better quality of life than patients who die in a hospital or ICU, and their bereaved caregivers experience less difficulty adjusting.[20] Dying at home is also associated with better symptom control and preparedness for death and with caregivers’ perceptions of a higher-quality death.[24] For more information, see Hospice

However, not all patients prefer to die at home, e.g., patients who are unmarried, non-White, and older.[25] The oncology clinician strives to facilitate a discussion about preferred place of death and a plan to overcome potential barriers to dying at the patient’s preferred site.

#### Pediatric populations

Approximately one-third to one-half of pediatric patients who die of cancer die in a hospital.[26,27] Dying in an inpatient setting has been associated with more intensive and invasive interventions in the last month of life for pediatric cancer patients and adverse psychosocial outcomes for caregivers.[28] For example, parents of children who die in the hospital experience more depression, anxiety, and complicated grief than parents of children who die outside of the hospital.[29]

A retrospective analysis of 321 pediatric cancer patients who died while enrolled in the palliative care service at St. Jude Children’s Research Hospital suggests that the following factors (with ORs) were associated with a higher likelihood of dying in the pediatric ICU:[30]

- Hematologic malignancy (OR, 7.42).
- Palliative care involvement fewer than 30 days before death (OR, 4.7).
- History of hematopoietic stem cell transplant (OR, 4.52).
- Hispanic ethnicity (OR, 4.02).
- Receipt of cancer-directed therapy in the last month of life (OR, 2.96).
- Total number of admissions to the pediatric ICU (OR, 1.98).

A separate retrospective analysis of 121 pediatric and young adult patients in the United Kingdom who died between 2012 and 2016 showed that 72% of patients who identified a preferred location of death achieved this wish. They included all patients who wanted to die at the hospital or under hospice care. In contrast, only 58% of patients who wished to die at home achieved this desire, which was often complicated by rapid deterioration. Treatment that focused on supportive care, rather than active chemotherapy or radiation therapy, increased the odds of achieving the patient's preferred place of death (OR, 3.19; P = .04).[31][Level of evidence: III] Pediatric care providers may want to consider the factors listed above to identify patients at higher risk of dying in an intensive inpatient setting, and to initiate early conversations about goals of care and preferred place of death.[30]

### References

Earle CC, Neville BA, Landrum MB, et al.: Trends in the aggressiveness of cancer care near the end of life. J Clin Oncol 22 (2): 315-21, 2004.14722041
Setoguchi S, Earle CC, Glynn R, et al.: Comparison of prospective and retrospective indicators of the quality of end-of-life cancer care. J Clin Oncol 26 (35): 5671-8, 2008.19001333
Ho TH, Barbera L, Saskin R, et al.: Trends in the aggressiveness of end-of-life cancer care in the universal health care system of Ontario, Canada. J Clin Oncol 29 (12): 1587-91, 2011.21402603
Fang P, Jagsi R, He W, et al.: Rising and Falling Trends in the Use of Chemotherapy and Targeted Therapy Near the End of Life in Older Patients With Cancer. J Clin Oncol 37 (20): 1721-1731, 2019.31141431
Johnson LA, Ellis C: Chemotherapy in the Last 30 Days and 14 Days of Life in African Americans With Lung Cancer. Am J Hosp Palliat Care 38 (8): 927-931, 2021.33111544
Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Wright AA, Zhang B, Keating NL, et al.: Associations between palliative chemotherapy and adult cancer patients' end of life care and place of death: prospective cohort study. BMJ 348: g1219, 2014.24594868
Donovan KA, Greene PG, Shuster JL, et al.: Treatment preferences in recurrent ovarian cancer. Gynecol Oncol 86 (2): 200-11, 2002.12144829
Buiting HM, Terpstra W, Dalhuisen F, et al.: The facilitating role of chemotherapy in the palliative phase of cancer: qualitative interviews with advanced cancer patients. PLoS One 8 (11): e77959, 2013.24223130
Buiting HM, Rurup ML, Wijsbek H, et al.: Understanding provision of chemotherapy to patients with end stage cancer: qualitative interview study. BMJ 342: d1933, 2011.21464103
Petrillo LA, El-Jawahri A, Gallagher ER, et al.: Patient-Reported and End-of-Life Outcomes Among Adults With Lung Cancer Receiving Targeted Therapy in a Clinical Trial of Early Integrated Palliative Care: A Secondary Analysis. J Pain Symptom Manage 62 (3): e65-e74, 2021.33617953
Glisch C, Hagiwara Y, Gilbertson-White S, et al.: Immune Checkpoint Inhibitor Use Near the End of Life Is Associated With Poor Performance Status, Lower Hospice Enrollment, and Dying in the Hospital. Am J Hosp Palliat Care 37 (3): 179-184, 2020.31307205
Parikh RB, Galsky MD, Gyawali B, et al.: Trends in Checkpoint Inhibitor Therapy for Advanced Urothelial Cell Carcinoma at the End of Life: Insights from Real-World Practice. Oncologist 24 (6): e397-e399, 2019.30944183
Petrillo LA, El-Jawahri A, Nipp RD, et al.: Performance status and end-of-life care among adults with non-small cell lung cancer receiving immune checkpoint inhibitors. Cancer 126 (10): 2288-2295, 2020.32142165
Glisch C, Saeidzadeh S, Snyders T, et al.: Immune Checkpoint Inhibitor Use Near the End of Life: A Single-Center Retrospective Study. J Palliat Med 23 (7): 977-979, 2020.31702481
Canavan M, Wang X, Ascha M, et al.: End-of-Life Systemic Oncologic Treatment in the Immunotherapy Era: The Role of Race, Insurance, and Practice Setting. J Clin Oncol 41 (30): 4729-4738, 2023.37339389
Addington-Hall JM, O'Callaghan AC: A comparison of the quality of care provided to cancer patients in the UK in the last three months of life in in-patient hospices compared with hospitals, from the perspective of bereaved relatives: results from a survey using the VOICES questionnaire. Palliat Med 23 (3): 190-7, 2009.19251834
Wallston KA, Burger C, Smith RA, et al.: Comparing the quality of death for hospice and non-hospice cancer patients. Med Care 26 (2): 177-82, 1988.3339915
Connor SR, Pyenson B, Fitch K, et al.: Comparing hospice and nonhospice patient survival among patients who die within a three-year window. J Pain Symptom Manage 33 (3): 238-46, 2007.17349493
Wright AA, Keating NL, Balboni TA, et al.: Place of death: correlations with quality of life of patients with cancer and predictors of bereaved caregivers' mental health. J Clin Oncol 28 (29): 4457-64, 2010.20837950
Teno JM, Shu JE, Casarett D, et al.: Timing of referral to hospice and quality of care: length of stay and bereaved family members' perceptions of the timing of hospice referral. J Pain Symptom Manage 34 (2): 120-5, 2007.17583469
Finlay E, Shreve S, Casarett D: Nationwide veterans affairs quality measure for cancer: the family assessment of treatment at end of life. J Clin Oncol 26 (23): 3838-44, 2008.18688050
Steinhauser KE, Christakis NA, Clipp EC, et al.: Factors considered important at the end of life by patients, family, physicians, and other care providers. JAMA 284 (19): 2476-82, 2000.11074777
Hales S, Chiu A, Husain A, et al.: The quality of dying and death in cancer and its relationship to palliative care and place of death. J Pain Symptom Manage 48 (5): 839-51, 2014.24703943
Jeurkar N, Farrington S, Craig TR, et al.: Which hospice patients with cancer are able to die in the setting of their choice? Results of a retrospective cohort study. J Clin Oncol 30 (22): 2783-7, 2012.22734023
Bradshaw G, Hinds PS, Lensing S, et al.: Cancer-related deaths in children and adolescents. J Palliat Med 8 (1): 86-95, 2005.15662177
Klopfenstein KJ, Hutchison C, Clark C, et al.: Variables influencing end-of-life care in children and adolescents with cancer. J Pediatr Hematol Oncol 23 (8): 481-6, 2001.11878774
Johnston EE, Alvarez E, Saynina O, et al.: Disparities in the Intensity of End-of-Life Care for Children With Cancer. Pediatrics 140 (4): , 2017.28963112
Rosenberg AR, Baker KS, Syrjala K, et al.: Systematic review of psychosocial morbidities among bereaved parents of children with cancer. Pediatr Blood Cancer 58 (4): 503-12, 2012.22038675
Kaye EC, DeMarsh S, Gushue CA, et al.: Predictors of Location of Death for Children with Cancer Enrolled on a Palliative Care Service. Oncologist 23 (12): 1525-1532, 2018.29728467
Stilwell P, Bhatt A, Mehta K, et al.: Preferred place of death in paediatric, teenage and young adult haemato-oncology patients: a retrospective review. BMJ Support Palliat Care 12 (e5): e650-e653, 2022.32209568

## Forgoing Potentially Life-Sustaining Treatments

A necessary goal of high-quality end-of-life (EOL) care is the alleviation of distressing symptoms that can lead to suffering. An important strategy to achieve that goal is to avoid or reduce medical interventions of limited effectiveness and high burden to the patients. There is, however, a great deal of confusion, anxiety, and miscommunication around the question of whether to utilize potentially life-sustaining treatments (LSTs) such as mechanical ventilation, total parenteral nutrition, and dialysis in the final weeks or days of life. To ensure that the best interests of the patient—as communicated by the patient, family, or surrogate decision maker—determine the decisions about LSTs, discussions can be organized around the following questions:

- What are the patient’s goals of care?
- How do the potential benefits of LST contribute to achieving the goals of care, and how likely is the desired outcome?
- How do the potential harms of LST detract from the patient’s goals of care, and does the likelihood of achieving the desired outcome or the value the patient assigns to the outcome justify the risk of harm?
- What considerations—other than the potential benefits and harms of LST—are relevant to the patient or surrogate decision maker?
- What other resources—e.g., palliative care, a chaplain, or a clinical ethicist—would help the patient or family with decisions about LST?

### Ethical Perspectives

Medicine is a moral enterprise. The decisions clinicians make are often highly subjective and value laden but seem less so because, equally often, there is a shared sense of benefit, harm, and what is most highly valued. Occasionally, disagreements arise or a provider is uncertain about what is ethically permissible. For example, an oncologist may favor the discontinuation or avoidance of LST, given the lack of evidence of benefit or the possibility of harm—including increasing the suffering of the dying person by prolonging the dying process—or based on concerns that LST interferes with the patient accepting that life is ending and finding peace in the final days. A provider also may be uncertain about whether withdrawing treatment is equivalent to causing the patient’s death. Conversely, the patient may continue to request LST based on personal beliefs and a preference for potential prolonged life, independent of the oncologist’s clinical risk-benefit analysis.

Individual values inform the moral landscape of the practice of medicine. The potential conflicts described above are opportunities to refine clinicians’ understanding of their beliefs and values and to communicate their moral reasoning to each other as a sign of integrity and respect.[1] As clinicians struggle to communicate their reasons for recommendations or actions, the following three questions may serve as a framework:[2]

- Who makes the decision?
- By what criteria do they make the decision?
- How are conflicts among decision makers resolved?

In the event of conflict, an ethics consult may be necessary to identify the sources of disagreement and potential solutions, although frameworks have been proposed to guide the clinician.[3] The following paragraphs summarize information relevant to the first two questions.

Respect for patient autonomy is an essential element of the relationship between oncology clinician and patient. Respect for autonomy encourages clinicians to elicit patients’ values, goals of care, and preferences and then seek to provide treatment or care recommendations consistent with patient preferences.[4] Autonomy is primarily a negative right to be free from the interference of others or, in health care, to refuse a recommended treatment or intervention.[5] On the basis of potential harm to others or deliberate harm to themselves, there are limits to what patients can expect in terms of their requests. More controversial limits are imposed when oncology clinicians feel they are asked to violate their ethical integrity or when the medical effectiveness of a treatment does not justify the burden.[2]

Perceived conflicts about the issue of patient autonomy may be avoided by recalling that promoting patient autonomy is not only about treatments administered but also about discussions with the patient.[4] It is acceptable for oncology clinicians to share the basis for their recommendations, including concerns such as clinician-perceived futility.[6,7]

The following criteria to consider forgoing a potential LST are not absolute and remain a topic of discussion and debate; however, they offer a frame of reference for deliberation:

- The possibility of forgoing a potential LST is worth considering when either the clinician perceives that the medical effectiveness of an intervention is not justified by the medical risks, or the patient perceives that the benefit (a more subjective appraisal) is not consistent with the burden.
- The goal of forgoing a potential LST is to relieve suffering as experienced by the patient and not to cause the death of the patient.[8] Measures that deliberately seek to end the life of the patient are more problematic.
- There is probably no difference between withholding or withdrawing a potential LST because the goal in both cases is to relieve or avoid further suffering.[9]
- The burden and suffering associated with medical interventions from the patient’s perspective are the most important criteria for forgoing a potential LST. Distinctions between simple interventions (e.g., intravenous [IV] hydration) and more complicated interventions (e.g., mechanical ventilation) do not determine supporting the patient’s decision to forgo a treatment.[10]

### Religious and Spiritual Beliefs

Awareness of the importance of religious beliefs and spiritual concerns within medical care has increased substantially over the last decade. National consensus guidelines, published in 2018, recommended the following:[11]

- That all patients receive a screening assessment for religious and spiritual concerns, followed by a more complete spiritual history.
- That all patients receive a formal assessment by a certified chaplain.
- That such information is placed in patient records, with follow-up at all appropriate times, including hospitalization at the EOL.

An interprofessional approach is recommended: medical personnel, including physicians, nurses, and other professionals such as social workers and psychologists, are trained to address these issues and link with chaplains, as available, to evaluate and engage patients. A survey of nurses and physicians revealed that most nurses (74%) and physicians (60%) desire to provide spiritual care, which was defined as “care that supports a patient’s spiritual health.”[12] The more commonly cited barriers associated with the estimated amount of spiritual care provided to patients included inadequate training and the belief that providing spiritual care is not part of the medical professional’s role. Most nurses (79%) desired training in spiritual care; fewer physicians (51%) did.

Evidence strongly supports that most cancer patients desire dialogue about these issues with their physicians, other staff as appropriate, and hospital chaplains, if indicated.[13] About one-half of patients acknowledge that they are not receiving such support from a religious community, either because they are not involved in one or because they do not perceive their community as supportive.[14] Regardless of such support, patients may report substantial spiritual distress at the EOL, ranging from as few as 10% or 15% of patients to as many as 60%.[15] Distress may range from anger at God, to a feeling of unworthiness, to lack of meaning. Such distress, if not addressed, may complicate EOL decisions and increase depression.

Finally, it has been shown that addressing religious and spiritual concerns earlier in the terminal-care process substantially decreases the likelihood that patients will request aggressive EOL measures.[16] In contrast, patients who have received strong support from their own religious communities alone are less likely to enter hospice and more likely to seek aggressive EOL care.[15] It has also been shown that providing more comprehensive palliative care increases spiritual well-being as the EOL approaches.[17]

For more information, see Spirituality in Cancer Care.

### Artificial Hydration

The potential indications for artificial hydration in the final weeks or days of life may be broadly defined by the underlying goal of either temporarily reversing or halting clinical deterioration or improving the comfort of the dying patient.[18] Although artificial hydration may be provided through enteral routes (e.g., nasogastric tubes or percutaneous gastrostomy tubes), the more common route is parenteral, either IV by catheter or subcutaneously through a needle (hypodermoclysis).

Although uncontrolled experience suggested several advantages to artificial hydration in patients with advanced cancer, a well-designed, randomized trial of 129 patients enrolled in home hospice demonstrated no benefit in parenteral hydration (1 L of normal saline infused subcutaneously over 4 hours) compared with placebo (100 mL of normal saline infused subcutaneously over 4 hours).[19] There were no differences in survival, symptoms, quality of life, or delirium.

A prospective evaluation of the outcomes of 161 patients with advanced-stage abdominal cancers who received parenteral hydration in accordance with Japanese national guidelines near the EOL suggests there is little harm or benefit in hydration.[20] The median survival of the cohort was 20 days (range, 1–84 days); the mean volume of parenteral hydration was 912 ± 495 mL/day. There were no significant trends in global quality of life, discomfort, or physical symptoms for ill or good; signs of fluid retention were common but not exacerbated. However, patients expressed a high level of satisfaction with hydration and felt it was beneficial. The guidelines specify that patients with signs of volume overload should receive less than 1 L of hydration per day. When the investigators stratified patients into two groups—those who received at least 1 L of parenteral hydration per day and those who received less than 1 L per day—the prevalence of bronchial secretions was higher and hyperactive delirium was lower in the patients who received more than 1 L.[20]

Any discussion about the risks or benefits of artificial hydration must include a consideration of patient and family perspectives.[21] Requests for artificial hydration or the desire for discussions about the role of artificial hydration seem to be driven by quality-of-life considerations as much as considerations for life prolongation.[22] Families may be helped with this decision when clinicians explain that use of artificial hydration in patients with cancer at the EOL has not been shown to help patients live longer or improve quality of life. Additionally, families can be educated about good mouth care and provision of sips of water to alleviate thirst.[23] The oncology clinician needs to approach these conversations with an open mind, recognizing that the harm caused by artificial hydration may be minimal relative to the perceived benefit, which includes reducing fatigue and increasing alertness.[24]

### Artificial Nutrition

The following discussion excludes patients for whom artificial nutrition may facilitate further anticancer treatment or for whom bowel obstruction is the main manifestation of their advanced cancer and for whom enteral or total parenteral nutrition may be of value.[25] Furthermore, artificial nutrition as a supplement may benefit the patient with advanced cancer who has a good performance status, a supportive home environment, and an anticipated survival longer than 3 months.[26,27]

The decisions about whether to provide artificial nutrition to the dying patient are similar to the decisions regarding artificial hydration. The American Academy of Hospice and Palliative Medicine (AAHPM) recommends that individual clinical situations be assessed using clinical judgment and skill to determine when artificial nutrition is appropriate. Recognizing that the primary intention of nutrition is to benefit the patient, AAHPM concludes that withholding artificial nutrition near the EOL may be appropriate medical care if the risks outweigh the possible benefit to the patient.[28]

Food should be offered to patients consistent with their desires and ability to swallow. The benefit of providing artificial nutrition in the final days to weeks of life, however, is less clear. One study has concluded that artificial nutrition—specifically, parenteral nutrition—neither influenced the outcome nor improved the quality of life in terminally ill patients.[29]

Providing artificial nutrition to patients at the EOL is a medical intervention and requires establishing enteral or parenteral access. Considerations of financial cost, burden to patient and family of additional hospitalizations and medical procedures, and all potential complications must be weighed against any potential benefit derived from artificial nutrition support.

In discussions with patients, the oncology clinician needs to recognize that the patient perception of benefit is worth exploring; as a compromise or acknowledgment of respect for the patient’s perspective, a time-limited trial may be warranted.[30]

### Anti-Infectives

The administration of anti-infectives, primarily antibiotics, in the last days of life is common, with antibiotic use reported in patients in the last week of life at rates ranging from 27% to 78%.[31-34][Level of evidence: III] Because of wide heterogeneity in the measurement of antibiotic use, assessment of symptom response, and lack of comparisons between patients receiving antimicrobials with those not receiving them, the benefit of antimicrobials is hard to define.[31] One retrospective study of 133 patients in a palliative care inpatient unit found that 68% received antimicrobials in their last 14 days of life, but the indication was documented in only 12% of these patients. White patients were more likely to receive antimicrobials than patients of other racial and ethnic backgrounds. Documented symptoms, including pain, dyspnea, fever, lethargy, and altered mental state, did not differ in the group that received antibiotics, compared with the patients who did not. However, the study’s conclusions were limited by the fact that it relied on retrospective chart review, and investigators did not use tools to measure and compare symptom severity in both groups.[34][Level of evidence: III]

An additional setting in which antimicrobial use may be warranted is that of contagious public health risks such as tuberculosis.[35] There is also concern that the continued use of antimicrobials in the last week of life may lead to increased risk of developing drug-resistant organisms.[36]

In general, most practitioners agree with the overall focus on patient comfort in the last days of life rather than providing curative therapies with unknown or marginal benefit, despite their ability to provide the therapy.[31,35-38]

### Transfusions

Anemia is common in patients with advanced cancer; thrombocytopenia is less common and typically occurs in patients with progressive hematological malignancies. The decision to transfuse either packed red cells or platelets is based on a careful consideration of the overall goals of care, the imminence of death, and the likely benefit and risks of transfusions. The decision to use blood products is further complicated by the potential scarcity of the resource and the typical need for the patient to receive transfusions in a specialized unit rather than at home.

There are no randomized or controlled prospective trials of the indications, safety, or efficacy of transfused products. It should be recognized, however, that many patients will have received transfusions during active disease treatment or periods of supportive care. Such patients may have notions of the importance of transfusions related to how they feel and their life expectancies.

Several considerations may be relevant to the decision to transfuse red blood cells:

- The response in terms of improvement in fatigue and breathlessness is modest and transitory.[39]
- A significant proportion of patients die within 14 days of transfusion, which raises the possibility that transfusions may be harmful or that transfusions were inappropriately given to dying patients.[39]
- Decisions to transfuse red cells should be based on symptoms and not a trigger value.[40]
- Transfusion of rare blood types or human leukocyte antigen–compatible platelet products is more difficult to justify.[41]

### Cardiopulmonary Resuscitation

Broadly defined, resuscitation includes all interventions that provide cardiovascular, respiratory, and metabolic support necessary to maintain and sustain the life of a dying patient. It is important for patients, families, and proxies to understand that choices may be made to specify which supportive measures, if any, are given preceding death and at the time of death. People often believe that there is plenty of time to discuss resuscitation and the surrounding issues; however, many dying patients do not make choices in advance or have not communicated their decisions to their families, proxies, and the health care team. If these issues are unresolved at the time of EOL events, undesired support and resuscitation may result. Studies suggest that this aggressive care is associated with worse patient quality of life and worse adjustment to bereavement for loved ones.[42,43]

Narrowly defined, a do-not-resuscitate (DNR) order instructs health care providers that, in the event of cardiopulmonary arrest, cardiopulmonary resuscitation (CPR, including chest compressions and/or ventilations) should not be performed and that natural death be allowed to proceed. DNR orders must be made before cardiac arrest and may be recommended by physicians when CPR is considered medically futile or would be ineffective in returning a patient to life. A DNR order may also be made at the instruction of the patient (or family or proxy) when CPR is not consistent with the goals of care.

It is advisable for a patient who has clear thoughts about these issues to initiate conversations with the health care team (or appointed health care agents in the outpatient setting) and to have forms completed as early as possible (i.e., before hospital admission), before the capacity to make such decisions is lost. Although patients with end-stage disease and their families are often uncomfortable bringing up the issues surrounding DNR orders, physicians and nurses can tactfully and respectfully address these issues appropriately and in a timely fashion. Lack of standardization in many institutions may contribute to ineffective and unclear discussions around DNR orders.[44]

### References

Kaldjian LC: Communicating moral reasoning in medicine as an expression of respect for patients and integrity among professionals. Commun Med 10 (2): 177-83, 2013.24851512
Pellegrino ED: Decisions to withdraw life-sustaining treatment: a moral algorithm. JAMA 283 (8): 1065-7, 2000.10697071
Goold SD, Williams B, Arnold RM: Conflicts regarding decisions to limit treatment: a differential diagnosis. JAMA 283 (7): 909-14, 2000.10685716
Billings JA, Krakauer EL: On patient autonomy and physician responsibility in end-of-life care. Arch Intern Med 171 (9): 849-53, 2011.21555664
The ethics of respect for persons: lying, cheating, and breaking promises and why physicians have considered them ethical. In: Veatch RM: The Basics of Bioethics. 3rd ed. Pearson Education, Inc., 2012, pp 62-83.
Blinderman CD, Krakauer EL, Solomon MZ: Time to revise the approach to determining cardiopulmonary resuscitation status. JAMA 307 (9): 917-8, 2012.22396511
Swindell JS, McGuire AL, Halpern SD: Beneficent persuasion: techniques and ethical guidelines to improve patients' decisions. Ann Fam Med 8 (3): 260-4, 2010 May-Jun.20458111
Olsen ML, Swetz KM, Mueller PS: Ethical decision making with end-of-life care: palliative sedation and withholding or withdrawing life-sustaining treatments. Mayo Clin Proc 85 (10): 949-54, 2010.20805544
Huddle TS: Moral fiction or moral fact? The distinction between doing and allowing in medical ethics. Bioethics 27 (5): 257-62, 2013.22296611
Rhymes JA, McCullough LB, Luchi RJ, et al.: Withdrawing very low-burden interventions in chronically ill patients. JAMA 283 (8): 1061-3, 2000.10697070
National Consensus Project for Quality Palliative Care: Clinical Practice Guidelines for Quality Palliative Care. 4th ed. National Coalition for Hospice and Palliative Care, 2018. Also available online. (https://www.nationalcoalitionhpc.org/wp-content/uploads/2020/07/NCHPC-NCPGuidelines_4thED_web_FINAL.pdf)Last accessed Jan. 24, 2025.
Balboni MJ, Sullivan A, Enzinger AC, et al.: Nurse and physician barriers to spiritual care provision at the end of life. J Pain Symptom Manage 48 (3): 400-10, 2014.24480531
Phelps AC, Lauderdale KE, Alcorn S, et al.: Addressing spirituality within the care of patients at the end of life: perspectives of patients with advanced cancer, oncologists, and oncology nurses. J Clin Oncol 30 (20): 2538-44, 2012.22614979
Balboni TA, Vanderwerker LC, Block SD, et al.: Religiousness and spiritual support among advanced cancer patients and associations with end-of-life treatment preferences and quality of life. J Clin Oncol 25 (5): 555-60, 2007.17290065
Balboni TA, Balboni M, Enzinger AC, et al.: Provision of spiritual support to patients with advanced cancer by religious communities and associations with medical care at the end of life. JAMA Intern Med 173 (12): 1109-17, 2013.23649656
Balboni TA, Paulk ME, Balboni MJ, et al.: Provision of spiritual care to patients with advanced cancer: associations with medical care and quality of life near death. J Clin Oncol 28 (3): 445-52, 2010.20008625
Zimmermann C, Swami N, Krzyzanowska M, et al.: Early palliative care for patients with advanced cancer: a cluster-randomised controlled trial. Lancet 383 (9930): 1721-30, 2014.24559581
Boland E, Johnson M, Boland J: Artificial hydration in the terminally ill patient. Br J Hosp Med (Lond) 74 (7): 397-401, 2013.24159642
Bruera E, Hui D, Dalal S, et al.: Parenteral hydration in patients with advanced cancer: a multicenter, double-blind, placebo-controlled randomized trial. J Clin Oncol 31 (1): 111-8, 2013.23169523
Yamaguchi T, Morita T, Shinjo T, et al.: Effect of parenteral hydration therapy based on the Japanese national clinical guideline on quality of life, discomfort, and symptom intensity in patients with advanced cancer. J Pain Symptom Manage 43 (6): 1001-12, 2012.22651946
Del Río MI, Shand B, Bonati P, et al.: Hydration and nutrition at the end of life: a systematic review of emotional impact, perceptions, and decision-making among patients, family, and health care staff. Psychooncology 21 (9): 913-21, 2012.22162174
Malia C, Bennett MI: What influences patients' decisions on artificial hydration at the end of life? A Q-methodology study. J Pain Symptom Manage 42 (2): 192-201, 2011.21444181
McCann RM, Hall WJ, Groth-Juncker A: Comfort care for terminally ill patients. The appropriate use of nutrition and hydration. JAMA 272 (16): 1263-6, 1994.7523740
Raijmakers NJ, Fradsham S, van Zuylen L, et al.: Variation in attitudes towards artificial hydration at the end of life: a systematic literature review. Curr Opin Support Palliat Care 5 (3): 265-72, 2011.21738035
Bozzetti F: Total parenteral nutrition in cancer patients. Curr Opin Support Palliat Care 1 (4): 281-6, 2007.18685376
McCallum PD, Fornari A: Nutrition in palliative care. In: Elliott L, Molseed LL, McCallum PD, eds.: The Clinical Guide to Oncology Nutrition. 2nd ed. American Dietetic Association, 2006, pp 201-7.
Orrevall Y, Tishelman C, Permert J: Home parenteral nutrition: a qualitative interview study of the experiences of advanced cancer patients and their families. Clin Nutr 24 (6): 961-70, 2005.16099552
Statement on Artificial Nutrition and Hydration Near the End of Life. American Academy of Hospice and Palliative Medicine, 2013. Available online (https://aahpm.org/advocacy/where-we-stand/anh/). Last accessed Jan. 24, 2025.
Torelli GF, Campos AC, Meguid MM: Use of TPN in terminally ill cancer patients. Nutrition 15 (9): 665-7, 1999.10467610
Dy SM: Enteral and parenteral nutrition in terminally ill cancer patients: a review of the literature. Am J Hosp Palliat Care 23 (5): 369-77, 2006 Oct-Nov.17060304
Rosenberg JH, Albrecht JS, Fromme EK, et al.: Antimicrobial use for symptom management in patients receiving hospice and palliative care: a systematic review. J Palliat Med 16 (12): 1568-74, 2013.24151960
Albrecht JS, McGregor JC, Fromme EK, et al.: A nationwide analysis of antibiotic use in hospice care in the final week of life. J Pain Symptom Manage 46 (4): 483-90, 2013.23317761
Nakagawa S, Toya Y, Okamoto Y, et al.: Can anti-infective drugs improve the infection-related symptoms of patients with cancer during the terminal stages of their lives? J Palliat Med 13 (5): 535-40, 2010.20201665
Lopez S, Vyas P, Malhotra P, et al.: A Retrospective Study Analyzing the Lack of Symptom Benefit With Antimicrobials at the End of Life. Am J Hosp Palliat Care 38 (4): 391-395, 2021.32830525
Ford PJ, Fraser TG, Davis MP, et al.: Anti-infective therapy at the end of life: ethical decision-making in hospice-eligible patients. Bioethics 19 (4): 379-92, 2005.16222854
Niederman MS, Berger JT: The delivery of futile care is harmful to other patients. Crit Care Med 38 (10 Suppl): S518-22, 2010.21164391
LeGrand SB, Walsh D: Comfort measures: practical care of the dying cancer patient. Am J Hosp Palliat Care 27 (7): 488-93, 2010.20801921
Lloyd-Williams M, Payne S: Can multidisciplinary guidelines improve the palliation of symptoms in the terminal phase of dementia? Int J Palliat Nurs 8 (8): 370-5, 2002.12271257
Preston NJ, Hurlow A, Brine J, et al.: Blood transfusions for anaemia in patients with advanced cancer. Cochrane Database Syst Rev 2: CD009007, 2012.22336857
Uceda Torres ME, Rodríguez Rodríguez JN, Sánchez Ramos JL, et al.: Transfusion in palliative cancer patients: a review of the literature. J Palliat Med 17 (1): 88-104, 2014.24325560
Smith LB, Cooling L, Davenport R: How do I allocate blood products at the end of life? An ethical analysis with suggested guidelines. Transfusion 53 (4): 696-700, 2013.22519756
Wright AA, Zhang B, Ray A, et al.: Associations between end-of-life discussions, patient mental health, medical care near death, and caregiver bereavement adjustment. JAMA 300 (14): 1665-73, 2008.18840840
Miyashita M, Morita T, Sato K, et al.: Factors contributing to evaluation of a good death from the bereaved family member's perspective. Psychooncology 17 (6): 612-20, 2008.17992703
Zhukovsky DS, Hwang JP, Palmer JL, et al.: Wide variation in content of inpatient do-not-resuscitate order forms used at National Cancer Institute-designated cancer centers in the United States. Support Care Cancer 17 (2): 109-15, 2009.18682989

## Dying in the Hospital or Intensive Care Unit

### No Further Escalation of Care

Patients with advanced cancer are often unprepared for a decline in health status near the end of life (EOL) and, as a consequence, they are admitted to the hospital for more aggressive treatments. This complicates EOL decision making because the treatments may prolong life, or at least are perceived as accomplishing that goal. At that point, patients or families may express ambivalence or be reluctant to withdraw treatments rather than withhold them.

One strategy to explore is preventing further escalation of care. The goal of this strategy is to provide a bridge between full life-sustaining treatment (LST) and comfort care, in which the goal is a good death. It has been suggested that clinicians may encourage no escalation of care because of concerns that the intensive medical treatments will prevent death, and therefore the patient will have missed the “opportunity to die.”[1] One study [2] described the care of 310 patients who died in the intensive care unit (ICU) (not all of whom had cancer). For 95 patients (30%), there was a decision not to escalate care. The average time from ICU admission to deciding not to escalate care was 6 days (range, 0–37), and the average time to death was 0.8 days (range, 0–5). The interventions most likely to be withheld were dialysis, vasopressors, and blood transfusions. Fifty-five percent of the patients eventually had all life support withdrawn. The transition to comfort care did not occur before death for the other decedents for the following reasons: waiting for family to arrive, change of family opinion, or waiting for an ethics consultation.

Conversely, some situations may warrant exploring with the patient and/or family a time-limited trial of intensive medical treatments. The patient or surrogates may choose to withdraw all LST if there is no improvement during the limited trial.[1] From an ethical standpoint, withdrawing treatment is equivalent to withholding such treatment. Both actions are justified for unwarranted or unwanted intensive care.

### Withdrawal of Ventilatory Support

Two methods of withdrawal have been described: immediate extubation and terminal weaning.[3]

Immediate extubation. Immediate extubation includes providing parenteral opioids for analgesia and sedating agents such as midazolam, suctioning to remove excess secretions, setting the ventilator to “no assist” and turning off all alarms, and deflating the cuff and removing the endotracheal tube. Gentle suctioning of the oral cavity may be necessary, but aggressive and deep suctioning should be avoided. In some cases, patients may appear to be in significant distress. Analgesics and sedatives may be provided, even if the patient is comatose. Family members and others who are present should be warned that some movements may occur after extubation, even in patients who have no brain activity. Such movements are probably caused by hypoxia and may include gasping, moving extremities, or sitting up in bed.[4] Immediate extubation is generally chosen when a patient has lost brain function, when a patient is comatose and unlikely to experience any suffering, or when a patient prefers a more rapid procedure.

Terminal weaning. Terminal weaning entails a more gradual process. Ventilator rate, oxygen levels, and positive end-expiratory pressure are decreased gradually over a period of 30 minutes to a few hours. A patient who survives may be placed on a T-piece; this may be left in place, or extubation may proceed. There is some evidence that the gradual process in a patient who may experience distress allows clinicians to assess pain and dyspnea and to modify the sedative and analgesic regimen accordingly.[5] In a study of 31 patients undergoing terminal weaning, most patients remained comfortable, as assessed by a variety of physiological measures, when low doses of opioids and benzodiazepines were administered. The average time to death in this study was 24 hours, although two patients survived to be discharged to hospice.[6]

Paralytic agents have no analgesic or sedative effects, and they can mask patient discomfort. These neuromuscular blockers need to be discontinued before extubation. Guidelines suggest that these agents should never be introduced when the ventilator is being withdrawn; in general, when patients have been receiving paralytic agents, these agents need to be withdrawn before extubation. The advantage of withdrawal of the neuromuscular blocker is the resultant ability of the health care provider to better assess the patient’s comfort level and to allow possible interaction between the patient and loved ones. One notable exception to withdrawal of the paralytic agent is when death is expected to be rapid after the removal of the ventilator and when waiting for the drug to reverse might place an unreasonable burden on the patient and family.[7]

Regardless of the technique employed, the patient and setting must be prepared. Monitors and alarms are turned off, and life-prolonging interventions such as antibiotics and transfusions need to be discontinued. Family members should be given sufficient time to prepare, including planning for the presence of all loved ones who wish to be in attendance. They need to be given information about what to expect during the process; some may elect to remain out of the room during extubation. Chaplains or social workers may be called to provide support to the family.

### References

Cochrane TI: Unnecessary time pressure in refusal of life-sustaining therapies: fear of missing the opportunity to die. Am J Bioeth 9 (4): 47-54, 2009.19326315
Morgan CK, Varas GM, Pedroza C, et al.: Defining the practice of "no escalation of care" in the ICU. Crit Care Med 42 (2): 357-61, 2014.23989181
Marr L, Weissman DE: Withdrawal of ventilatory support from the dying adult patient. J Support Oncol 2 (3): 283-8, 2004 May-Jun.15328827
Heytens L, Verlooy J, Gheuens J, et al.: Lazarus sign and extensor posturing in a brain-dead patient. Case report. J Neurosurg 71 (3): 449-51, 1989.2769397
Truog RD, Cist AF, Brackett SE, et al.: Recommendations for end-of-life care in the intensive care unit: The Ethics Committee of the Society of Critical Care Medicine. Crit Care Med 29 (12): 2332-48, 2001.11801837
Campbell ML, Bizek KS, Thill M: Patient responses during rapid terminal weaning from mechanical ventilation: a prospective study. Crit Care Med 27 (1): 73-7, 1999.9934896
Truog RD, Burns JP, Mitchell C, et al.: Pharmacologic paralysis and withdrawal of mechanical ventilation at the end of life. N Engl J Med 342 (7): 508-11, 2000.10675435

## The Dying Person and Intractable Suffering

### Suffering at the End of Life (EOL)

#### Patient perspectives

Published in 2013, a prospective observational study of 64 patients who died of cancer serially assessed symptoms, symptom intensity, and whether symptoms were unbearable.[1] Weakness was the most prevalent symptom (93% of patients). Fifty-one percent of patients rated their weakness as high intensity; of these, 84% rated their suffering as unbearable. Pain, loss of control over one’s life, and fear of future suffering were unbearable when symptom intensity was high.

#### Informal caregiver perspectives

Caregiver suffering is a complex construct that refers to severe distress in caregivers’ physical, psychosocial, and spiritual well-being. Several studies have reported strong associations between patients’ and caregivers’ emotional states. In a systematic review of 19 descriptive studies of caregivers during the palliative, hospice, and bereavement phases, analysis of patient-caregiver dyads found mutuality between the patient’s condition and the caregiver’s response. Caregivers were found to be at increased risk of physical and psychological burden across studies, with caregiver distress sometimes exceeding that of the patient.[2]

Several studies have categorized caregiver suffering with the use of dyadic analysis. In a qualitative study involving 22 dyadic semistructured interviews, caregivers dealing with advanced medical illness, including cancer, reported both unique and shared forms of suffering. Suffering was characterized as powerlessness, threat to the caregiver’s identity, and demands exceeding resources.[3] Because caregiver suffering can affect patient well-being and result in complicated bereavement, early identification and support of caregiver suffering are optimal.[4] For more information, see Informal Caregivers in Cancer: Roles, Burden, and Support.

### Palliative Sedation

Palliative sedation may be defined as the deliberate pharmacological lowering of the level of consciousness, with the goal of relieving symptoms that are unacceptably distressing to the patient and refractory to optimal palliative care interventions. In considering a patient’s request for palliative sedation, clinicians need to identify any personal biases that may adversely affect their ability to respond effectively to such requests. Several points need to be borne in mind:

- There is no evidence that palliative sedation shortens life expectancy when applied in the last days of life.[5]
- The goal of palliative sedation is to relieve intractable suffering.
- Discussions about palliative sedation may lead to insights into how to better care for the dying person. For example, requests for palliative sedation may create an opportunity to understand the implications of symptoms for the suffering person and to encourage the clinician to try alternative interventions to relieve symptoms.
- When dealing with requests for palliative sedation, health care professionals need to consider their own cultural and religious biases and reflect on the commitment they make as clinicians to the dying person.[6]

The following questions may serve to organize discussions about the appropriateness of palliative sedation within health care teams and between clinicians, patients, and families:

- What are the indications for palliative sedation?
- Has the patient received optimal palliative care short of palliative sedation?
- What is the intended level of consciousness?
- Will the palliative sedation be maintained continuously until death or adjusted to reassess the patient’s symptom distress?
- What are the plans for discontinuation or maintenance of hydration, nutrition, or other potentially life-sustaining treatments (LSTs)?

#### Indications for palliative sedation

The two broad indications for palliative sedation are refractory physical symptoms and refractory existential or psychological distress. A retrospective study at the MD Anderson Cancer Center in Houston included 1,207 patients admitted to the palliative care unit. Palliative sedation was used in 15% of admissions. The most common indications were delirium (82%) and dyspnea (6%).[7]

The use of palliative sedation for refractory existential or psychological symptoms is highly controversial. In a survey of the attitudes and experiences of more than 1,000 U.S. physicians toward intentional sedation to unconsciousness until death revealed that 68% of respondents opposed palliative sedation for existential distress. Of note, only 10% of physician respondents had prescribed palliative sedation in the preceding 12 months.[8] A previous survey conducted by the same research group reported that only 18% of surveyed physicians objected to “sedation to unconsciousness in dying patients” without a specified indication.[9]

One potential objection or concern related to palliative sedation for refractory existential or psychological distress is unrecognized but potentially remediable depression. For more information, see the Requests for Hastened Death section.

Further objections or concerns include (1) whether the principle of double effect, an ethical basis for the use of palliative sedation for refractory physical distress, is adequate justification; and (2) cultural expectations about psychological or existential suffering at the EOL. The principle of double effect is based on the concept of proportionality. When applied to palliative sedation, this principle supports the idea that the intended effect of palliative sedation (i.e., relief of suffering) may justify a foreseeable-but-unintended consequence (such as possibly shortening life expectancy—although this is not supported by data, as mentioned above—or eliminating the opportunity to interact with loved ones) if the intended (positive) outcome is of greater value than the unintended (negative) outcome.[10] Thus, in the case of palliative sedation for refractory psychological or existential distress, the perception that palliative sedation is not justified may reflect a devaluation of the distress associated with such suffering or that other means with fewer negative consequences have not been fully explored.

#### Intended level of sedation

Another decision to be made is whether the intended level of sedation is unconsciousness or a level associated with relief of the distress attributed to physical or psychological symptoms. In a survey of U.S. physicians,[8] two-thirds of respondents felt that unconsciousness was an acceptable unintended consequence of palliative sedation, but deliberate unconsciousness was unacceptable. This finding may relate to the sense of proportionality. A qualitative study of 54 physicians who had administered palliative sedation indicated that physicians who were more concerned with ensuring that suffering was relieved were more likely to administer palliative sedation to unconsciousness. Physicians who chose mild sedation were guided more by their assessment of the patient’s condition.[11]

#### Intended duration of sedation

Palliative sedation may be provided either intermittently or continuously until death. If a clinician anticipates that a distressing symptom will improve with time, then that clinician should discuss with the patient any recommendations about a deliberate reduction in the depth of sedation to assess whether the symptoms persist. Furthermore, deliberate reductions in the depth of sedation may be appropriate if there is a desire for communication with loved ones.

For example, a single-center observational study monitored 89 (mostly male) hospice patients with cancer who received either intermittent or continuous palliative sedation with midazolam, propofol, and/or phenobarbital for delirium (61%), dyspnea (20%), or pain (15%). Mental status changes in the 37 patients who received intermittent palliative sedation for delirium were as follows, after sedation was lightened: 43.2% unchanged, 40.6% improved, and 16.2% worsened. Unsurprisingly, mental status remained the same or worsened for all patients who received continuous palliative sedation for delirium. Notably, median survival time was only 1 day for patients who received continuous sedation, compared to 6 days for the intermittent palliative sedation group, though the authors hypothesize that this difference may be attributed to a poorer baseline clinical condition in the patients who received continuous sedation rather than to a direct effect of continuous sedation.[12]

#### Role of potentially LSTs during palliative sedation

The intent of palliative sedation is to relieve suffering; it is not to shorten life. The decision to discontinue or maintain treatments such as artificial hydration or nutrition requires a review of the patient’s goals of care and the potential for benefit or harm. In general, the absence of evidence for benefit seems to justify recommendations to forgo LSTs in the context of palliative sedation. On the other hand, open lines of communication and a respectful and responsive awareness of a patient’s preferences are important to maintain during the dying process, so the clinician should not overstate the potential risks of hydration or nutrition. There is consensus that decisions about LSTs are distinct from the decision to administer palliative sedation.

### Requests for Hastened Death

#### Potential reasons for requests

Requests for hastened death or statements that express a desire to die vary from expression of a temporary or passive wish to a sustained interest in interventions to end life or a statement of intent to plan or die by suicide.[13] Reliable data on the frequency of requests for hastened death are not available.

Requests for hastened death provide the oncology clinician with an opportunity to explore and respond to the dying patient’s experience in an attentive and compassionate manner. From the patient’s perspective, the reasons for requests for hastened death are multiple and complex and include the following:

- Depression or a sense of hopelessness.[14]
- Uncontrollable pain or other physical symptoms, with decreased quality of life.[15]
- Loss of personal identity and social relations.[16]
- To avoid being a burden to others.[17]

The cited studies summarize the patient’s perspectives. Surveys of health care providers demonstrate similar findings and reasons.

#### Responding to requests

Recommendations are based on principles of counseling and expert opinion. Specific studies are not available. The first and most important consideration is for health care providers to maintain awareness of their personal reactions to requests or statements. It is imperative that the oncology clinician expresses a supportive and accepting attitude. Providers who are too uncomfortable to engage in a discussion need to explain to a patient the need for a referral to another provider for assistance.[18] Other prudent advice includes the following:

- Be open to concerns.
- Assess other contributing factors.
- Respond to specific issues.
- Conclude the discussion with a summary and a plan.

### References

Ruijs CD, Kerkhof AJ, van der Wal G, et al.: Symptoms, unbearability and the nature of suffering in terminal cancer patients dying at home: a prospective primary care study. BMC Fam Pract 14: 201, 2013.24373224
Williams AL, McCorkle R: Cancer family caregivers during the palliative, hospice, and bereavement phases: a review of the descriptive psychosocial literature. Palliat Support Care 9 (3): 315-25, 2011.21838952
Meeker MA, Waldrop DP, Schneider J, et al.: Contending with advanced illness: patient and caregiver perspectives. J Pain Symptom Manage 47 (5): 887-95, 2014.24035069
Hebert RS, Arnold RM, Schulz R: Improving well-being in caregivers of terminally ill patients. Making the case for patient suffering as a focus for intervention research. J Pain Symptom Manage 34 (5): 539-46, 2007.17616333
Maltoni M, Scarpi E, Rosati M, et al.: Palliative sedation in end-of-life care and survival: a systematic review. J Clin Oncol 30 (12): 1378-83, 2012.22412129
George R: Suffering and healing--our core business. Palliat Med 23 (5): 385-7, 2009.19528137
Elsayem A, Curry Iii E, Boohene J, et al.: Use of palliative sedation for intractable symptoms in the palliative care unit of a comprehensive cancer center. Support Care Cancer 17 (1): 53-9, 2009.18461370
Putman MS, Yoon JD, Rasinski KA, et al.: Intentional sedation to unconsciousness at the end of life: findings from a national physician survey. J Pain Symptom Manage 46 (3): 326-34, 2013.23219679
Curlin FA, Nwodim C, Vance JL, et al.: To die, to sleep: US physicians' religious and other objections to physician-assisted suicide, terminal sedation, and withdrawal of life support. Am J Hosp Palliat Care 25 (2): 112-20, 2008 Apr-May.18198363
Olsen ML, Swetz KM, Mueller PS: Ethical decision making with end-of-life care: palliative sedation and withholding or withdrawing life-sustaining treatments. Mayo Clin Proc 85 (10): 949-54, 2010.20805544
Swart SJ, van der Heide A, van Zuylen L, et al.: Considerations of physicians about the depth of palliative sedation at the end of life. CMAJ 184 (7): E360-6, 2012.22331961
Won YW, Chun HS, Seo M, et al.: Clinical Patterns of Continuous and Intermittent Palliative Sedation in Patients With Terminal Cancer: A Descriptive, Observational Study. J Pain Symptom Manage 58 (1): 65-71, 2019.31026509
Hudson PL, Kristjanson LJ, Ashby M, et al.: Desire for hastened death in patients with advanced disease and the evidence base of clinical guidelines: a systematic review. Palliat Med 20 (7): 693-701, 2006.17060268
Breitbart W, Rosenfeld B, Pessin H, et al.: Depression, hopelessness, and desire for hastened death in terminally ill patients with cancer. JAMA 284 (22): 2907-11, 2000.11147988
Wilson KG, Scott JF, Graham ID, et al.: Attitudes of terminally ill patients toward euthanasia and physician-assisted suicide. Arch Intern Med 160 (16): 2454-60, 2000.10979056
Coyle N, Sculco L: Expressed desire for hastened death in seven patients living with advanced cancer: a phenomenologic inquiry. Oncol Nurs Forum 31 (4): 699-709, 2004.15252426
Mak YY, Elwyn G: Voices of the terminally ill: uncovering the meaning of desire for euthanasia. Palliat Med 19 (4): 343-50, 2005.15984507
Hudson PL, Schofield P, Kelly B, et al.: Responding to desire to die statements from patients with advanced disease: recommendations for health professionals. Palliat Med 20 (7): 703-10, 2006.17060269

## Grief and Bereavement

Family members are likely to experience grief at the death of their loved one. If left unattended, loss, grief, and bereavement can become complicated, leading to prolonged and significant distress for either family members or clinicians. Furthermore, clinicians are at risk of experiencing significant grief from the cumulative effects of many losses through the deaths of their patients. Burnout has also been associated with unresolved grief in health care professionals. For more information, see Grief, Bereavement, and Coping With Loss.

## Challenges to the Professional Caregiver

Oncologists and nurses caring for terminally ill cancer patients are at risk of suffering personally, owing to the clinical intensity and chronic loss inherent in their work. Lack of training in advance care planning and communication can leave oncologists vulnerable to burnout, depression, and professional dissatisfaction.[1] One group of investigators studied oncologists’ grief related to patient death and found strong impact in both the personal and professional realms. Negative effects included a sense of distraction and withdrawal from patients.[2]

One study made an important conceptual distinction, explaining that while grief is healthy for oncologists, stress and burnout can be counterproductive.[3] Other terms used to describe professional suffering are moral distress, emotional exhaustion, and depersonalization.[4] Moral distress was measured in a descriptive pilot study involving 29 physicians and 196 nurses caring for dying patients in intensive care units. Both groups of professionals experienced moral distress related to pressure to continue aggressive treatment they considered futile. Nurses experienced more moral distress than did physicians, and perceived less collaboration than did their physician colleagues.[5]

Several strategies have been recommended to help professionals manage the emotional toll of working with advanced-cancer patients and terminally ill cancer patients, including self-care, teamwork, professional mentorship, reflective writing, mindfulness techniques, and working through the grief process.[6]

### References

Meier DE, Back AL, Morrison RS: The inner life of physicians and care of the seriously ill. JAMA 286 (23): 3007-14, 2001.11743845
Granek L, Tozer R, Mazzotta P, et al.: Nature and impact of grief over patient loss on oncologists' personal and professional lives. Arch Intern Med 172 (12): 964-6, 2012.22732754
Shayne M, Quill TE: Oncologists responding to grief. Arch Intern Med 172 (12): 966-7, 2012.22732755
Edmonds C, Lockwood GM, Bezjak A, et al.: Alleviating emotional exhaustion in oncology nurses: an evaluation of Wellspring's "Care for the Professional Caregiver Program". J Cancer Educ 27 (1): 27-36, 2012.22042712
Hamric AB, Blackhall LJ: Nurse-physician perspectives on the care of dying patients in intensive care units: collaboration, moral distress, and ethical climate. Crit Care Med 35 (2): 422-9, 2007.17205001
Sanchez-Reilly S, Morrison LJ, Carey E, et al.: Caring for oneself to care for others: physicians and their self-care. J Support Oncol 11 (2): 75-81, 2013.23967495

## Latest Updates to This Summary (02/12/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Overview

Updated statistics with estimated new deaths for 2025 (cited American Cancer Society as reference 1).

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about patient care during the last days to last hours of life. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Last Days of Life are:

- Larry D. Cripe, MD (Indiana University School of Medicine)
- Tammy I. Kang, MD, MSCE, FAAHPM (Texas Children's Pavilion for Women)
- Joanna J. Sharpless, MD (University of California San Francisco)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Last Days of Life. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/advanced-cancer/caregivers/planning/last-days-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389307]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).